# Oral Complications of Cancer Therapies (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the pathophysiology and treatment of oral complications of cancer therapies. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

The field of oral complications caused by cancer therapies continues to evolve for a number of reasons, including:

- High-quality basic, translational, and clinical research.
- Translation of selected clinical interventions into systematic reviews and clinical practice guidelines based on this research.
- Advances in cancer treatment via precision medicine technology.
- Increased understanding of the value of integration of tumor treatment with evidence-based supportive care.

The oral cavity represents a unique anatomic and functional site. Clinical prevention and management of oral complications in patients with cancer should be based on state-of-the-science and implemented in an interprofessional practice setting. The interprofessional team includes, but is not limited to, oncologists, oncology nurses and nurse navigators, dental generalists and specialists, dental hygienists, social workers, and dieticians.

The type and severity of oral complications vary by classification, intensity, and duration of cancer therapy. Table 1 shows examples of these oral complications.

Table 1. Medically Necessary Oral Interventions, by Type of Cancer Therapy

Cancer Therapy | Before Cancer Therapy | During Cancer Therapy | After Cancer Therapy
Chemotherapy, high dose (e.g., <1,000 WBC/µL for more than 5 days) and chemotherapy, moderate to low dose (e.g., nadir of 2,500 WBC/µL) | Advanced dental caries, with potential for pulpal involvement | Maintain effective oral hygiene | Implement preventive and treatment protocols to optimize oral health
Chemotherapy, high dose (e.g., <1,000 WBC/µL for more than 5 days) and chemotherapy, moderate to low dose (e.g., nadir of 2,500 WBC/µL) | Dentition with moderate/severe periodontal disease | Maintain effective oral hygiene | Implement preventive and treatment protocols to optimize oral health
Chemotherapy, high dose (e.g., <1,000 WBC/µL for more than 5 days) and chemotherapy, moderate to low dose (e.g., nadir of 2,500 WBC/µL) | Periapical lesions secondary to dental pulpal infection that have been symptomatic within the past 90 days | Maintain effective oral hygiene | Implement preventive and treatment protocols to optimize oral health
Chemotherapy, high dose (e.g., <1,000 WBC/µL for more than 5 days) and chemotherapy, moderate to low dose (e.g., nadir of 2,500 WBC/µL) | Dental appliances (e.g., dentures, orthodontic appliances) that may traumatize oral mucosa | Maintain effective oral hygiene | Implement preventive and treatment protocols to optimize oral health
Chemotherapy, high dose (e.g., <1,000 WBC/µL for more than 5 days) and chemotherapy, moderate to low dose (e.g., nadir of 2,500 WBC/µL) | Patient education | Assess for possible acute infection of oral origin | Implement preventive and treatment protocols to optimize oral health
Chemotherapy, high dose (e.g., <1,000 WBC/µL for more than 5 days) and chemotherapy, moderate to low dose (e.g., nadir of 2,500 WBC/µL) | Patient education | Manage oral mucositis, including oral hygiene and pain management | Implement preventive and treatment protocols to optimize oral health
HSCT, reduced intensity chemotherapy (e.g., nadir of 2,500 WBC/µL) and HSCT, myeloablative chemotherapy (e.g., <1,000 WBC/µL for more than 5 days) | Advanced dental caries, with potential for pulpal involvement | Maintain effective oral hygiene | Implement preventive and treatment protocols to optimize oral health
HSCT, reduced intensity chemotherapy (e.g., nadir of 2,500 WBC/µL) and HSCT, myeloablative chemotherapy (e.g., <1,000 WBC/µL for more than 5 days) | Dentition with moderate/severe periodontal disease | Maintain effective oral hygiene | Implement preventive and treatment protocols to optimize oral health
HSCT, reduced intensity chemotherapy (e.g., nadir of 2,500 WBC/µL) and HSCT, myeloablative chemotherapy (e.g., <1,000 WBC/µL for more than 5 days) | Periapical lesions secondary to dental pulpal infection that have been symptomatic within the past 90 days | Assess for possible acute infection of oral origin | Implement preventive and treatment protocols to optimize oral health
HSCT, reduced intensity chemotherapy (e.g., nadir of 2,500 WBC/µL) and HSCT, myeloablative chemotherapy (e.g., <1,000 WBC/µL for more than 5 days) | Dental appliances (e.g., dentures, orthodontic appliances) that may traumatize oral mucosa | Assess for possible acute infection of oral origin | Implement preventive and treatment protocols to optimize oral health
HSCT, reduced intensity chemotherapy (e.g., nadir of 2,500 WBC/µL) and HSCT, myeloablative chemotherapy (e.g., <1,000 WBC/µL for more than 5 days) | Patient education | Manage oral mucositis, including oral hygiene and pain management | Implement preventive and treatment protocols to optimize oral health
HSCT, GVHD | Determine likelihood of developing acute and/or chronic GVHD, depending on type of transplant | Differentiate oral mucosal injury caused by chemotherapy and acute oral GVHD | Monitor for emergence of chronic oral GVHD, potentially malignant mucosal disease, and/or oral squamous cell carcinoma
HSCT, GVHD | Patient education | Provide supportive care, including oral hygiene and pain control | Monitor for emergence of chronic oral GVHD, potentially malignant mucosal disease, and/or oral squamous cell carcinoma
Head and neck radiation, high dose | Determine need for medically necessary dental extractions and potential change in occlusal vertical dimension, based on the following: | Maintain oral hygiene and nutritional support | Implement preventive and treatment protocols to optimize oral health
Head and neck radiation, high dose | • Advanced dental caries, with potential for pulpal involvement | Maintain oral hygiene and nutritional support | Implement preventive and treatment protocols to optimize oral health
Head and neck radiation, high dose | • Dentition involved with moderate/severe periodontal disease | Maintain oral hygiene and nutritional support | Implement preventive and treatment protocols to optimize oral health
Head and neck radiation, high dose | • Periapical lesions secondary to dental pulpal infection that have been symptomatic within the past 90 days | Maintain oral hygiene and nutritional support | Implement preventive and treatment protocols to optimize oral health
Head and neck radiation, high dose | • Dental appliances (e.g., dentures, orthodontic appliances) that may traumatize oral mucosa | Maintain oral hygiene and nutritional support | Implement preventive and treatment protocols to optimize oral health
Head and neck radiation, high dose | Patient education | Manage oral mucositis, including oral hygiene and pain management | Implement preventive and treatment protocols to optimize oral health
Head and neck radiation, high dose | Patient education | Prescribe jaw opening and closing exercises to reduce risk of trismus | Monitor for risk of osteoradionecrosis, recurrent or new oral mucosal malignancy
Head and neck radiation, deintensification (HPV + oropharyngeal squamous cell carcinoma) | Same as high-dose head and neck radiation; risk for late effects appears to be reduced | Same as high-dose head and neck radiation | Same as high dose head and neck radiation; risk for late effects appears to be reduced
Head and neck radiation, deintensification (HPV + oropharyngeal squamous cell carcinoma) | Patient education | Same as high-dose head and neck radiation | Patient education
Immunotherapy and targeted cancer therapies | Document baseline oral mucosal status | Assess number and severity of oral mucosal lesions clinically documented to be caused by immunotherapy/targeted therapy | Monitor for possible late adverse oral effects
Immunotherapy and targeted cancer therapies | Patient education | Provide topical, intralesional, or systemic steroid treatment if oral pain is sufficiently severe | Monitor for possible late adverse oral effects
Bone-stabilizing agents | Eliminate advanced dental caries that approaches the dental pulp | Perform periodic systematic dental evaluations for compliance with oral hygiene and assessment of dentition, periodontium, and oral mucosa | Perform periodic systematic dental evaluations for compliance with oral hygiene and assessment of dentition, periodontium, and oral mucosa
Bone-stabilizing agents | Extract teeth with poor long-term prognosis due to periodontal disease and/or dental caries | Perform periodic systematic dental evaluations for compliance with oral hygiene and assessment of dentition, periodontium, and oral mucosa | Perform periodic systematic dental evaluations for compliance with oral hygiene and assessment of dentition, periodontium, and oral mucosa
Bone-stabilizing agents | Correct ill-fitting, removable dental prostheses that cause or could cause mucosal trauma and potential bone exposure | Perform periodic systematic dental evaluations for compliance with oral hygiene and assessment of dentition, periodontium, and oral mucosa | Perform periodic systematic dental evaluations for compliance with oral hygiene and assessment of dentition, periodontium, and oral mucosa
Bone-stabilizing agents | Patient education | | Perform periodic systematic dental evaluations for compliance with oral hygiene and assessment of dentition, periodontium, and oral mucosa
Bone-stabilizing agents | Patient education

GVHD = graft versus host disease; HPV = human papillomavirus; HSCT = hematopoietic stem cell transplant; WBC = white blood cell.

Clinicians may consider many factors about oral interventions, including the following:

- Patient’s immune status.
- Pending time to initiation of cancer therapy.
- Intensity and duration of cancer therapy.

Many of the oral complications that develop in oncology patients are characterized by considerable biological and clinical complexity.[1-12]

### References

Mougeot JC, Stevens CB, Morton DS, et al.: Oral Microbiome and Cancer Therapy-Induced Oral Mucositis. J Natl Cancer Inst Monogr 2019 (53): , 2019.31425594
Lalla RV, Brennan MT, Gordon SM, et al.: Oral Mucositis Due to High-Dose Chemotherapy and/or Head and Neck Radiation Therapy. J Natl Cancer Inst Monogr 2019 (53): , 2019.31425601
Keefe DMK, Bateman EH: Potential Successes and Challenges of Targeted Cancer Therapies. J Natl Cancer Inst Monogr 2019 (53): , 2019.31425592
Carrozzo M, Eriksen JG, Bensadoun RJ, et al.: Oral Mucosal Injury Caused by Targeted Cancer Therapies. J Natl Cancer Inst Monogr 2019 (53): , 2019.31425602
Epstein JB, Miaskowski C: Oral Pain in the Cancer Patient. J Natl Cancer Inst Monogr 2019 (53): , 2019.31425595
Fall-Dickson JM, Pavletic SZ, Mays JW, et al.: Oral Complications of Chronic Graft-Versus-Host Disease. J Natl Cancer Inst Monogr 2019 (53): , 2019.31425593
Deng J, Wulff-Burchfield EM, Murphy BA: Late Soft Tissue Complications of Head and Neck Cancer Therapy: Lymphedema and Fibrosis. J Natl Cancer Inst Monogr 2019 (53): , 2019.31425591
Murphy BA, Wulff-Burchfield E, Ghiam M, et al.: Chronic Systemic Symptoms in Head and Neck Cancer Patients. J Natl Cancer Inst Monogr 2019 (53): , 2019.31425597
Spijkervet FKL, Brennan MT, Peterson DE, et al.: Research Frontiers in Oral Toxicities of Cancer Therapies: Osteoradionecrosis of the Jaws. J Natl Cancer Inst Monogr 2019 (53): , 2019.31425599
Jensen SB, Vissink A, Limesand KH, et al.: Salivary Gland Hypofunction and Xerostomia in Head and Neck Radiation Patients. J Natl Cancer Inst Monogr 2019 (53): , 2019.31425600
Migliorati CA, Brennan MT, Peterson DE: Medication-Related Osteonecrosis of the Jaws. J Natl Cancer Inst Monogr 2019 (53): , 2019.31425596
Elting LS, Chang YC: Costs of Oral Complications of Cancer Therapies: Estimates and a Blueprint for Future Study. J Natl Cancer Inst Monogr 2019 (53): , 2019.31425598

## Oral Management of Patients Receiving Chemotherapy

### Before Chemotherapy

Oral evaluation and management of patients scheduled to undergo myeloablative chemotherapy should occur as early as possible before initiation of therapy (see the list in Oral Disease Stabilization Before Chemotherapy and/or Hematopoietic Stem Cell Transplant [HSCT] and Table 1). The overall goal is to complete a comprehensive oral care plan that eliminates or stabilizes oral disease that could otherwise produce complications during or after chemotherapy. To maximize positive outcomes, the oncology team should inform the dentist about the patient’s medical status and oncology treatment plan. In turn, the dental team should delineate and communicate a plan for oral disease management before, during, and after chemotherapy.[1]

Oral Disease Stabilization Before Chemotherapy and/or Hematopoietic Stem Cell Transplant (HSCT)
- Data provided by the oncology team to dental providers includes the following:
  - Underlying disease:
    - Cancer type, stage, and prognosis.
    - Hematologic status and metabolic panel.
    - Additional data based on clinical status.
  - Type of chemotherapy:
    - High/moderate/low dose (without HSCT).
  - Type of transplant:
    - Autologous.
    - Allogeneic donor types:
      - Matched related and unrelated.
      - Mismatched related.
      - Mismatched unrelated.
    - Syngeneic.
  - Hematopoietic stem cell source:
    - Bone marrow.
    - Peripheral stem cells.
    - Cord blood stem cells.
  - Conditioning regimen:
    - Myeloablative.
    - Reduced-intensity conditioning (including nonmyeloablative regimens).
  - Planned date of transplant.
  - Conditioning regimen:
    - Chemotherapy.
    - Total-body irradiation.
    - Radioactive antibodies.
  - Current hematologic and immunologic status.
  - Current medications.
  - Other medical considerations:
    - Cardiac disease.
    - Pulmonary disease.
    - Indwelling venous access line.
    - Coagulation status.
    - Splenectomy.
- Data provided by dental providers to the oncology team includes the following:
  - Dental caries (number of teeth and severity, including number of teeth that should be treated before cancer treatment begins).
  - Endodontic disease:
    - Teeth with pulpal infection.
    - Teeth with periapical infection.
  - Periodontal disease status.
  - Number of teeth requiring extraction, as well as anticipated degree of surgical complexity.
  - Other urgent care required.
  - Time necessary to complete stabilization of oral disease.

The three categories of dental evaluation and treatment protocols before cancer therapy include the following:[2]

i. Complete protocols:
  - All dental pathologies are treated before antineoplastic chemotherapy and HSCT are initiated.
ii. Partial protocols:
  - Teeth with apical periodontitis are managed only if they are symptomatic and if size of the periapical lesion is 5 mm or more.
  - Teeth are extracted only if they have severe periodontitis (probing depth of ≥8 mm) and/or Miller's Class III mobility, they are expected to exfoliate within a few weeks, or if partially erupted third molars are symptomatic and with purulence.
iii. Minimal protocols:
  - Patients are treated only if they are symptomatic.

Partial dental evaluation/treatment protocols may be appropriate when there is insufficient time for complete dental evaluation/treatment protocols.[3][Level of evidence: IV]

Periodontal therapy before and maintenance after cancer therapy (both head and neck radiation and antineoplastic chemotherapy) are suggested for general good oral health.[3]

### During Chemotherapy

Oral complications during chemotherapy are common. Dentists play an important role on the cancer treatment team by evaluating patients before chemotherapy, with the goal of optimizing their oral health status, minimizing complications, and educating patients to maintain optimal oral hygiene. Routine, systematic oral hygiene is important to reduce incidence and severity of oral sequelae of cancer therapy. The patient must be informed of the rationale for the oral hygiene program, as well as the potential side effects of cancer chemotherapy. Effective oral hygiene is important during cancer treatment, with an emphasis on oral hygiene management before treatment starts.[1,4]

Management of patients undergoing either high-dose chemotherapy or upper-mantle radiation share selected common principles. These principles are based on baseline oral care and reduction of physical trauma to oral mucosa (see Guidelines for the Management of Dentures and Orthodontic Appliances in Patients Receiving High-Dose Cancer Therapy).

Variation exists across institutions relative to specific nonmedicated approaches to baseline oral care, given limited published evidence. Most nonmedicated oral care protocols use topical, frequent (every 4–6 hours) rinsing with 0.9% saline. Additional interventions include dental brushing with toothpaste, dental flossing, ice chips, and sodium bicarbonate rinses. Patient compliance with these agents can be maximized with monitoring by the health care team.[1][Level of evidence: IV]

Guidelines for the Management of Dentures and Orthodontic Appliances in Patients Receiving High-Dose Cancer Therapy
- Minimize denture use during first 3 weeks posttransplant.[4]
  - Wear dentures only when eating.
  - Discontinue use at all other times.
- Clean twice a day with a soft brush and rinse well.
- Soak in antimicrobial solutions when not being worn.
- Perform routine oral mucosal care procedures 3 to 4 times a day with the oral appliances out of the mouth.
- Leave appliances out of the mouth when sleeping and during periods of significant mouth soreness.
- Dentures may be used to hold medications needed for oral care (e.g., antifungals).
- Discontinue use of removable appliances until oral mucositis has healed.
- Remove orthodontic appliances (e.g., brackets, wires, retainers) before conditioning.

Dental brushing and flossing are simple, cost-effective approaches to control of bacterial dental plaque. This strategy is designed to reduce the risk of oral soft tissue infection during myeloablation. For more information, see the Infection section.

Patients skilled at flossing without traumatizing gingival tissues may continue to floss throughout chemotherapy administration. Flossing allows for interproximal removal of dental bacterial plaque and promotes gingival health.

The oral cavity should be cleaned after meals, as follows:

- If dry mouth is present, plaque and food debris may accumulate secondary to reduced salivary function, and more frequent hygiene may be necessary.
- Dentures need to be cleaned with denture cleanser every day and brushed and rinsed after meals.
- Rinsing the oral cavity may not be sufficient for thorough cleansing of the oral tissues; mechanical plaque removal is often necessary.
- Care must be taken in using mechanical hygiene aids; dental floss, interproximal brushes, and wooden wedges can injure oral tissues rendered fragile by chemotherapy.
- Toothettes have limited ability to cleanse the dentition; however, they may be useful for cleaning maxillary/mandibular alveolar ridges of edentulous areas, palate, and tongue.

Preventing dry lips to reduce the risk of tissue injury is important. Mouth breathing and/or xerostomia secondary to anticholinergic medications used for nausea management can induce the condition. Graft-versus-host disease can also contribute to dry lips in allogeneic transplant patients. Lip care products containing petroleum-based oils and waxes can be useful. Lanolin-based creams and ointments may be more effective in moisturizing/lubricating the lips and protecting against trauma.

#### Oral mucositis (high-dose chemotherapy, HSCT, head and neck radiation)

Oral mucositis is one of the most common side effects of cytotoxic cancer regimens. The terms oral mucositis and stomatitis are often used interchangeably at the clinical level, but they do not reflect identical processes.

Oral Mucositis:
- Inflammation of oral mucosa resulting from chemotherapeutic agents or ionizing radiation.[5,6]
- Manifests as erythema or ulcerations.
- May be exacerbated by local factors.

Stomatitis:
- Any inflammatory condition of oral tissue, including mucosa, dentition/periapices, and periodontium.
- Includes infections of oral tissues as well as mucositis.

The current model of oral mucositis involves a complex five-step trajectory of molecular, cellular, and tissue-based changes involving the oral microbiome.[7 ,5]

Patients receiving cycled chemotherapy or conditioning regimens before HSCT develop the first signs of mucositis 3 to 4 days after infusion. Oral ulcer formation begins during the second week of treatment—with the highest severity between days 7 and 14—and then resolves spontaneously in the week after cessation of cytotoxic chemotherapy.[8] Clinicians need to be alert to the potential for increased toxicity with escalating dose or treatment duration in clinical trials that demonstrate gastrointestinal mucosal toxicity.

Several health professional organizations have produced evidence-based guidelines for oral mucositis, including the following:

- Multinational Association of Supportive Care in Cancer/International Society of Oral Oncology (MASCC/ISOO).[9-11][Level of evidence: IV]
- National Comprehensive Cancer Network.[12]
- The Cochrane Collaboration.[13]

Many recommendations are similar across the organizations. The Cochrane Collaboration, however, uses a meta-analysis approach that provides a unique context for purposes of guideline construction.

##### Management of oral mucositis

Oral care protocols include atraumatically cleansing the oral mucosa, maintaining lubrication of the lips and oral tissues, and relieving pain and inflammation. Oral mucositis is minimized with the use of mild-flavored fluoridated toothpaste. Avoidance of spicy, acidic, hard, and hot foods and beverages will also decrease oral mucositis.

Management of oral mucositis via topical approaches should address efficacy, patient acceptance, and appropriate dosing. A stepped approach is typically used, with progression from one level to the next.

- Bland rinses:
  - 0.9% saline solution.
  - Sodium bicarbonate solution.
  - 0.9% saline/sodium bicarbonate solution.
- Topical anesthetics:
  - Lidocaine: viscous, ointments, sprays.
  - Benzocaine: sprays, gels.
  - 0.5% or 1.0% dyclonine hydrochloride (HCl).
  - Diphenhydramine solution.
- Mucosal coating agents:
  - Amphojel.
  - Kaopectate.
  - Hydroxypropyl methylcellulose film-forming agents (e.g., Zilactin).
  - Gelclair (approved by the U.S. Food and Drug Administration as a device).
  - Caphosol.
  - Episil.
  - MuGard.
- Analgesics:
  - Opioid drugs: oral, intravenous (e.g., bolus, continuous infusion, patient-controlled analgesia), patches, transmucosal. Morphine may be used to treat pain caused by oral mucositis in patients undergoing HSCT. Morphine mouthwash (0.2%) may be used in patients receiving chemoradiation for head and neck cancer. Transdermal fentanyl may be given to patients receiving conventional or high-dose chemotherapy, with or without total body irradiation.[14][Level of evidence: IV]
- Growth factor (keratinocyte growth factor-1):
  - Palifermin for patients receiving high-dose chemotherapy and total body irradiation, followed by autologous stem cell transplant, for a hematological malignancy.[15]
- Cryotherapy in patients receiving bolus fluorouracil chemotherapy.[16]
- Low-level laser therapy to prevent oral mucositis in patients receiving HSCT conditioned with high-dose chemotherapy, with or without total body irradiation.[17][Level of evidence: IV]
- Zinc supplements administered orally in oral cancer patients receiving radiation therapy or chemoradiation.[18][Level of evidence: IV]

A soft toothbrush that is replaced regularly should be used to maintain oral hygiene.[19][Level of evidence: IV] Foam-swab brushes do not effectively clean teeth and should not be considered a routine substitute for a soft, nylon-bristled toothbrush. Additionally, the rough sponge surface may irritate and damage the mucosal surfaces opposite the tooth surfaces being brushed.

Irrigation should be performed before topical medication is applied because removal of debris and saliva allows for better coating of oral tissues and prevents material from accumulating. Frequent rinsing cleans and lubricates tissues, prevents crusting, and palliates painful gingiva and mucosa.

Systemic analgesics are administered when topical anesthetic strategies are not sufficient for clinical relief. Nonsteroidal anti-inflammatory drugs that affect platelet adhesion and damage gastric mucosa are contraindicated, especially if thrombocytopenia is present.

MASCC/ISOO recommendations against specific practices include the following:

- No PTA (polymyxin, tobramycin, amphotericin B) and BCoG (bacitracin, clotrimazole, gentamicin) for oral mucositis in patients receiving radiation therapy for head and neck cancer.[14][Level of evidence: IV]
- No iseganan antimicrobial mouthwash.[14][Level of evidence: IV]
- No sucralfate mouthwash.[14][Level of evidence: IV]
- No intravenous glutamine.[18][Level of evidence: IV]

Table 2. Oral Mucositis Scales

Grade | World Health Organization | National Cancer Institute^a^ | RTOG
0 | No findings | No findings | No findings
1 | Erythema and soreness | Asymptomatic or mild symptoms; intervention not indicated | Painless ulcers, erythema, or mild soreness
2 | Oral erythema, ulcers; solid diet tolerated | Moderate pain does not interfere with oral intake, but modified diet indicated | Painful erythema, edema, or ulcers but can eat
3 | Ulcers requiring liquid diet | Severe pain interfering with oral intake | Painful erythema, edema, or ulcers and cannot eat
4 | Ulcers and not able to tolerate a solid or liquid diet | Life-threatening consequence; urgent intervention indicated | Requires parenteral or enteral support
5 | N/A | Death | N/A

N/A = not applicable; RTOG = Radiation Therapy Oncology Group.

^a^Common Terminology Criteria for Adverse Events, version 5.[20].

#### Xerostomia and salivary hypofunction caused by antiemetics

Xerostomia is defined as the subjective feeling of oral dryness and can be accompanied by salivary gland hypofunction. Xerostomia is likely to occur when the salivary ﬂow rate is less than the rate of ﬂuid absorption across the oral mucosa plus the rate of ﬂuid evaporation from the oral cavity.[21][Level of evidence: IV] (See Table 3.)

Table 3. Definitions of Xerostomia, Hyposalivation, and Salivary Gland Hypofunction and Dysfunction

Term | Definition
Xerostomia | Subjective feeling of oral dryness
Dry mouth | Xerostomia and/or salivary gland hypofunction
Hyposalivation | Decreased salivary output (whole saliva ﬂow rate of ≤0.1 mL/min of unstimulated saliva and <0.7 mL/min of stimulated saliva)
Salivary gland hypofunction | Decreased salivary output
Salivary gland dysfunction | Changes in quantity and/or quality of saliva

Administration of antiemetic agents for the management of chemotherapy-induced nausea and vomiting is related to several toxicities, including gastrointestinal, renal, hepatic, and cardiovascular adverse events.[22] Some of these agents are reported to induce xerostomia or salivary gland hypofunction. (See Table 4.)

Table 4. Antiemetic Agents Associated With Xerostomia or Salivary Gland Hypofunction

Pharmacological Class | Mechanism | Agents | References
5-HT3 receptor antagonists | Serotonin reuptake inhibitor[22] | Granisetron | [23]
5-HT3 receptor antagonists | Serotonin reuptake inhibitor[22] | Ondansetron | [24]
Dopamine antagonists | Blocks dopamine receptors | Prochlorperazine | [25]
Dopamine antagonists | Blocks dopamine receptors | Metoclopramide | [25]
Atypical antipsychotics | Antagonist to dopamine, 5-HT, histamine, muscarinics, and alpha-1 adrenergic receptors[26] | Olanzapine | [27- 38]
Cannabinoids | Stimulates receptors within the endocannabinoid system | Nabilone | [39 - 41]
Benzodiazepines | Serotonin reuptake inhibitor, GABA agonist[21,26] | Alprazolam | [42]
Benzodiazepines | Serotonin reuptake inhibitor, GABA agonist[21,26] | Lorazepam | [43]
NK-1 receptor antagonists | Substance P binding inhibitor[22] | Rolapitant | [44]

5-HT3 = 5-hydroxytryptamine receptor 3; GABA = gamma-aminobutyric acid; NK-1 = neurokinin-1.

For information about antiemetic therapy, and nausea and vomiting related to chemotherapy and radiation therapy, see Nausea and Vomiting Related to Cancer Treatment.

### Oral and Dental Management After Chemotherapy

After cancer therapy, routine systematic oral hygiene is also important for reducing incidence and severity of oral sequelae, restoring functional and aesthetic impairments, and removing the remaining foci of infection.

### References

Schubert MM, Correa MEP, Peterson DE: Oral complications of hematopoietic cell transplantation. In: Forman SJ, Negrin RS, Antin JH, et al., eds.: Thomas’ Hematopoietic Cell Transplantation: Stem Cell Transplantation. 5th ed. John Wiley & Sons, Ltd, 2016, pp 1242-56.
Decker AM, Taichman LS, D'Silva NJ, et al.: Periodontal Treatment in Cancer Patients: An Interdisciplinary Approach. Curr Oral Health Rep 5 (1): 7-12, 2018.29910997
Hong CHL, Hu S, Haverman T, et al.: A systematic review of dental disease management in cancer patients. Support Care Cancer 26 (1): 155-174, 2018.28735355
Hong CHL, Gueiros LA, Fulton JS, et al.: Systematic review of basic oral care for the management of oral mucositis in cancer patients and clinical practice guidelines. Support Care Cancer 27 (10): 3949-3967, 2019.31286232
Bowen J, Al-Dasooqi N, Bossi P, et al.: The pathogenesis of mucositis: updated perspectives and emerging targets. Support Care Cancer 27 (10): 4023-4033, 2019.31286231
Lalla RV, Brennan MT, Gordon SM, et al.: Oral Mucositis Due to High-Dose Chemotherapy and/or Head and Neck Radiation Therapy. J Natl Cancer Inst Monogr 2019 (53): , 2019.31425601
Mougeot JC, Stevens CB, Morton DS, et al.: Oral Microbiome and Cancer Therapy-Induced Oral Mucositis. J Natl Cancer Inst Monogr 2019 (53): , 2019.31425594
Sonis ST: Oral mucositis in head and neck cancer: risk, biology, and management. Am Soc Clin Oncol Educ Book : , 2013.23714511
Elad S: The MASCC/ISOO Mucositis Guidelines 2019 Update: introduction to the first set of articles. Support Care Cancer 27 (10): 3929-3931, 2019.31286226
Elad S: The MASCC/ISOO mucositis guidelines 2019: the second set of articles and future directions. Support Care Cancer 28 (5): 2445-2447, 2020.32052136
Lalla RV, Bowen J, Barasch A, et al.: MASCC/ISOO clinical practice guidelines for the management of mucositis secondary to cancer therapy. Cancer 120 (10): 1453-61, 2014.24615748
Bensinger W, Schubert M, Ang KK, et al.: NCCN Task Force Report. prevention and management of mucositis in cancer care. J Natl Compr Canc Netw 6 (Suppl 1): S1-21; quiz S22-4, 2008.18289497
Riley P, Glenny AM, Worthington HV, et al.: Interventions for preventing oral mucositis in patients with cancer receiving treatment: cytokines and growth factors. Cochrane Database Syst Rev 11: CD011990, 2017.29181845
Saunders DP, Epstein JB, Elad S, et al.: Systematic review of antimicrobials, mucosal coating agents, anesthetics, and analgesics for the management of oral mucositis in cancer patients. Support Care Cancer 21 (11): 3191-207, 2013.23832272
Logan RM, Al-Azri AR, Bossi P, et al.: Systematic review of growth factors and cytokines for the management of oral mucositis in cancer patients and clinical practice guidelines. Support Care Cancer 28 (5): 2485-2498, 2020.32080767
Riley P, Glenny AM, Worthington HV, et al.: Interventions for preventing oral mucositis in patients with cancer receiving treatment: oral cryotherapy. Cochrane Database Syst Rev 2015 (12): CD011552, 2015.26695736
Zadik Y, Arany PR, Fregnani ER, et al.: Systematic review of photobiomodulation for the management of oral mucositis in cancer patients and clinical practice guidelines. Support Care Cancer 27 (10): 3969-3983, 2019.31286228
Yarom N, Hovan A, Bossi P, et al.: Systematic review of natural and miscellaneous agents for the management of oral mucositis in cancer patients and clinical practice guidelines-part 1: vitamins, minerals, and nutritional supplements. Support Care Cancer 27 (10): 3997-4010, 2019.31286229
Keefe DM, Schubert MM, Elting LS, et al.: Updated clinical practice guidelines for the prevention and treatment of mucositis. Cancer 109 (5): 820-31, 2007.17236223
National Cancer Institute: Common Terminology Criteria for Adverse Events (CTCAE), Version 5.0. Bethesda, Md: U.S. Department of Health and Human Services, National Institutes of Health, 2017. Available online (https://ctep.cancer.gov/protocolDevelopment/electronic_applications/docs/CTCAE_v5_Quick_Reference_8.5x11.pdf). Last accessed Dec. 18, 2024.
Villa A, Wolff A, Narayana N, et al.: World Workshop on Oral Medicine VI: a systematic review of medication-induced salivary gland dysfunction. Oral Dis 22 (5): 365-82, 2016.26602059
Adel N: Overview of chemotherapy-induced nausea and vomiting and evidence-based therapies. Am J Manag Care 23 (14 Suppl): S259-S265, 2017.28978206
Moreno J, Sahade M, del Giglio A: Low-dose granisetron for prophylaxis of acute chemotherapy-induced nausea and vomiting: a pilot study. Support Care Cancer 13 (10): 850-3, 2005.15838618
Abas MN, Tan PC, Azmi N, et al.: Ondansetron compared with metoclopramide for hyperemesis gravidarum: a randomized controlled trial. Obstet Gynecol 123 (6): 1272-1279, 2014.24807340
Zuccato E, Bertolo C, Salomoni M, et al.: The effects of S(-) and R(+) sulpiride, metoclopramide, cisapride and domperidone on the small intestine suggest DA2-receptors are involved in the control of small intestinal transit time in rats. Pharmacol Res 26 (2): 179-85, 1992.1409258
Wolff A, Joshi RK, Ekström J, et al.: A Guide to Medications Inducing Salivary Gland Dysfunction, Xerostomia, and Subjective Sialorrhea: A Systematic Review Sponsored by the World Workshop on Oral Medicine VI. Drugs R D 17 (1): 1-28, 2017.27853957
Godoy T, Riva A, Ekström J: Atypical antipsychotics--effects of amisulpride on salivary secretion and on clozapine-induced sialorrhea. Oral Dis 18 (7): 680-91, 2012.22458406
Ekström J, Godoy T, Loy F, et al.: Parasympathetic vasoactive intestinal peptide (VIP): a likely contributor to clozapine-induced sialorrhoea. Oral Dis 20 (3): e90-6, 2014.23731177
Tollefson GD, Birkett MA, Kiesler GM, et al.: Double-blind comparison of olanzapine versus clozapine in schizophrenic patients clinically eligible for treatment with clozapine. Biol Psychiatry 49 (1): 52-63, 2001.11163780
Johnsen E, Jørgensen HA: Effectiveness of second generation antipsychotics: a systematic review of randomized trials. BMC Psychiatry 8: 31, 2008.18439263
Kumar A, Gupta M, Jiloha RC, et al.: Efficacy of olanzapine and sodium valproate given alone or as add-on therapy in acute mania. A comparative study. Methods Find Exp Clin Pharmacol 32 (5): 319-24, 2010.20664822
McIntyre RS, Cohen M, Zhao J, et al.: Asenapine versus olanzapine in acute mania: a double-blind extension study. Bipolar Disord 11 (8): 815-26, 2009.19832806
Bridle C, Palmer S, Bagnall AM, et al.: A rapid and systematic review and economic evaluation of the clinical and cost-effectiveness of newer drugs for treatment of mania associated with bipolar affective disorder. Health Technol Assess 8 (19): iii-iv, 1-187, 2004.15147609
Budman CL, Gayer A, Lesser M, et al.: An open-label study of the treatment efficacy of olanzapine for Tourette's disorder. J Clin Psychiatry 62 (4): 290-4, 2001.11379844
Conley RR, Meltzer HY: Adverse events related to olanzapine. J Clin Psychiatry 61 (Suppl 8): 26-9; discussion 30, 2000.10811240
Fulton B, Goa KL: Olanzapine. A review of its pharmacological properties and therapeutic efficacy in the management of schizophrenia and related psychoses. Drugs 53 (2): 281-98, 1997.9028746
Stauffer VL, Sniadecki JL, Piezer KW, et al.: Impact of race on efficacy and safety during treatment with olanzapine in schizophrenia, schizophreniform or schizoaffective disorder. BMC Psychiatry 10: 89, 2010.21047395
Jain T, Bhandari A, Ram V: Drug interactions and adverse drug reactions in hospitalized psychiatric patients: A critical element in providing safe medication use. German Journal of Psychiatry, 14: 26-34, 2011. Also available online (https://web.archive.org/web/20180409223706id_/http://www.gjpsy.uni-goettingen.de/gjp-article-jain2.pdf).
Berlach DM, Shir Y, Ware MA: Experience with the synthetic cannabinoid nabilone in chronic noncancer pain. Pain Med 7 (1): 25-9, 2006.16533193
Skrabek RQ, Galimova L, Ethans K, et al.: Nabilone for the treatment of pain in fibromyalgia. J Pain 9 (2): 164-73, 2008.17974490
Ware MA, Fitzcharles MA, Joseph L, et al.: The effects of nabilone on sleep in fibromyalgia: results of a randomized controlled trial. Anesth Analg 110 (2): 604-10, 2010.20007734
Huber SJ, Paulson GW: Efficacy of alprazolam for essential tremor. Neurology 38 (2): 241-3, 1988.3340287
Yamagishi H, Kawaguchi M: Characterization of central- and peripheral-type benzodiazepine receptors in rat salivary glands. Biochem Pharmacol 55 (2): 209-14, 1998.9448744
Wang X, Zhang ZY, Wang J, et al.: Pharmacokinetics, Safety, and Tolerability of Rolapitant Administered Intravenously Following Single Ascending and Multiple Ascending Doses in Healthy Subjects. Clin Pharmacol Drug Dev 8 (2): 160-171, 2019.29905976

## Oral Management of Patients Receiving Hematopoietic Stem Cell Transplant

Hematopoietic stem cell transplant (HSCT) is a complex immune-based cellular therapy used to manage a wide range of malignant and nonmalignant conditions, including the following:[1]

- Blood cancers.
- Childhood immunodeficiency and metabolic disorders.
- Hemoglobinopathies.
- Autoimmune diseases.

Autologous transplant uses an individual’s own isolated hematopoietic cells as a “graft” to reconstitute bone marrow function after an intensive chemotherapy regimen that would otherwise cause irreversible marrow toxicity. While recipients of autologous HSCT are at risk of anticipated toxicities of high-dose chemotherapy (e.g., neutropenia, thrombocytopenia, mucositis, and nausea and vomiting), they are not at risk of developing the immune-related complications frequently associated with allogeneic HSCT. Allogeneic HSCT similarly functions by engraftment and restoration of bone marrow function, but in the case of hematologic malignancies the graft also provides a graft-versus-tumor sustained immunological response. This response is important for maintaining long-term remission but is also associated with development of graft-versus-host disease (GVHD).

Recipients of HSCT have unique oral health needs and considerations that span from pre-HSCT workup through survivorship.[2-7] Management requires coordinated multidisciplinary care. See Table 1 for management before, during, and after HSCT.

### Pretransplant Dental Evaluation

Patients undergoing HSCT experience long-term myelosuppression and immunosuppression. The oral cavity may be a potential source of local as well as systemic inflammation and infection. To reduce risk, patients should undergo a comprehensive dental evaluation by an experienced dentist before undergoing HSCT.[2-5]

The dental evaluation consists of the following:

- A thorough dental screening (caries, defective restorations, mobile teeth, teeth with deep pocketing, third molars, periapical pathology).
- A soft tissue examination.
- A full mouth series of intraoral radiographs (an orthopantomogram of the maxilla and mandible may be sufficient, and additional intraoral radiographs may be ordered, if necessary).

For children, oral care instructions and dental management are similar to those for adults.[3] When primary teeth with pulpal infection are involved, many clinicians choose to provide a more definitive treatment in the form of extraction. For more information, see the Special Considerations in Pediatric Populations section.

A dental evaluation is scheduled as early as possible to allow sufficient time to complete any necessary treatment and for tissues to heal after dental extractions and professional periodontal care. Patients who are thrombocytopenic and require invasive procedures, such as dental extractions, may require coordinated platelet transfusion support.

Table 5. Pretransplant Dental Evaluation

Finding | Management
Dental caries | Treat caries, provide endodontic therapy, or extract nonvital/abscessed teeth
Faulty or missing restorations | Replace restoration, eliminate sharp edges
Periapical pathology | Pulpitis: Provide endodontic treatment
Periapical pathology | Periapical periodontitis >5 mm: Provide endodontic therapy or extraction
Periapical pathology | No treatment necessary for previously endodontically treated teeth with persistent periapical pathology without evidence of infection
Periodontal disease | Perform scaling and root planing
Periodontal disease | Extract symptomatic teeth, teeth with advanced mobility, teeth with probings >8 mm
Pericoronitis | Extract associated third molar
Prosthetic treatment | Ensure adequate fit and function

### Oral Care During Transplant

Maintenance of good oral hygiene is essential to reduce the risk of infection.[2,5] Gingival inflammation caused by oral bacteria increases the risk of gingival bleeding and bacteremia. Oral hygiene aims to remove plaque from all surfaces of the teeth. A dental/oral self-examination should be performed daily. Patients need to brush their teeth two to three times a day to reduce dental plaque, using a soft manual or electric toothbrush and a fluoride toothpaste. If possible, the patient’s teeth should be gently flossed daily. Removable dental prostheses are cleaned in a similar manner as teeth. Dentures are then placed in a cleaning solution overnight.

Bland oral rinses (0.9% saline and/or 0.5% sodium bicarbonate solution) can help remove debris and maintain moist and healthy mucosa, but they are not a substitute for mechanical cleaning. Chlorhexidine rinses are often prescribed for the duration of neutropenia. The nonalcoholic chlorhexidine digluconate (0.12%–0.2%) solution is easier to tolerate for patients with sensitive oral mucosa.

#### Mucositis

Oral mucositis is one of the most debilitating toxicities of stem cell transplant and requires a multidisciplinary approach.[6-8] For more information, see the Oral mucositis (high-dose chemotherapy, HSCT, head and neck radiation) section.

#### Oral infections

Infections are a frequent complication of HSCT during neutropenic periods. Infections may be fungal, viral, or bacterial. Coexistent oral conditions such as oral mucositis and GVHD often complicate prompt diagnosis of infections. For more information, see the Infection section.

#### Other common noninfectious oral findings

Hairy tongue is characterized by marked accumulation of keratin on the dorsum of the tongue, resulting in a hair-like appearance. This occurs largely because of limited oral intake, soft/liquid diet, and xerostomia. Similar hyperkeratosis (although not hair-like) may be observed on the hard palate and gingiva. Thrombocytopenia predisposes the oral mucosa to development of asymptomatic petechiae and ecchymoses and sometimes hematomas. The lesions may appear at the buccal mucosa, lateral tongue, and soft palate, secondary to chewing and swallowing, and resolve with the restoration of platelet count.

### Oral Health After Transplant

#### Mouth care and dental care

Following hospital discharge after HSCT, patients are instructed to continue daily routine mouth care and see a dentist for a routine follow-up examination and dental prophylaxis approximately 6 months after a HSCT and every 6 months thereafter.[2,5][Level of evidence: IV]

#### GVHD

GVHD can be broadly classified as acute or chronic, with defining features being largely clinical rather than by time frame of onset.[9] (See Table 6 and Table 7.)

Table 6. Graft-Versus-Host Disease Classification

Category (Acute and Chronic) | Timing of Onset After HSCT or DLI | Presence of Acute GVHD Features | Presence of Chronic GVHD Features
Classic acute GVHD | ≤100 days | Yes | No
Late-onset acute GVHD | >100 days | Yes | No
Classic chronic GVHD | No time limit | No | Yes
Overlap syndrome | No time limit | Yes | Yes

DLI = donor lymphocyte infusion; GVHD = graft-versus-host disease; HSCT = hematopoietic stem cell transplant.

Table 7. Clinical Features of Graft-Versus-Host Disease (GVHD)

System/Organ | Acute GVHD | Chronic GVHD
Eyes | | Xerophthalmia
Mouth | Mucositis (nonspecific erythema multiforme–like), lip crusting | Lichen planus-like changes, xerostomia
Skin | Maculopapular rash, erythroderma with or without bulla | Poikiloderma, lichen planus-like changes, scleroderma, nail dystrophy
Gastrointestinal | Nausea, vomiting, diarrhea, anorexia
Liver | Elevated bilirubin levels
Lung | | Bronchiolitis obliterans
Genital | | Lichen planus-like changes

##### Acute GVHD

Acute GVHD typically occurs within the first 100 days and classically presents with skin, liver, and gastrointestinal tract involvement. Infrequently, the mouth can be affected, presenting with erythema multiforme-like features, including lip crusting and diffuse intraoral erythema and ulcerations.[10]

##### Chronic GVHD

Chronic GVHD, which affects 50% to 80% of allogeneic HSCT recipients, is an autoimmune-like condition characterized by chronic inflammation, fibrosis, disability, and diminished quality of life.[9,11] The oral cavity is commonly affected and is often the initial site of involvement. GVHD can persist in the oral cavity after it has resolved in other affected areas.

###### Clinical features of oral chronic GVHD

Oral mucosal involvement resembles oral lichen planus, with characteristic lacy white striations, erythema, and ulcerations.[10,11] Lesions can present on all oral mucosal surfaces but most frequently affect the buccal mucosa and tongue. Lip involvement can also be prominent, ranging from hyperkeratosis and dryness to extensive ulceration. Superficial mucoceles—characterized by small, transient, clear-fluid–filled vesicles—are particularly common on the palate, which has a high concentration of minor salivary gland tissue. While oral mucosal chronic GVHD can be painful at rest, the most common symptom is sensitivity, defined as oral discomfort with stimulation, typically with acidic, spicy, or strongly flavored items (e.g., mint, chocolate), as well as hard and crusty foods.

Chronic GVHD affecting the salivary glands resembles Sjögren syndrome, and affected patients frequently have concurrent involvement of the lacrimal glands and associated ocular chronic GVHD. In addition to experiencing symptoms of xerostomia, patients are at increased risk of developing dental caries and recurrent oral candidiasis. Oral mucosal sensitivity, even in the absence of mucosal lichenoid changes, is common.

Sclerodermatous chronic GVHD affecting the oral cavity is uncommon but can be debilitating. Patients with cutaneous, sclerodermatous chronic GVHD may have extension to the perioral tissues, leading to limited mouth opening, as seen in patients with progressive systemic sclerosis. Intraoral fibrosis can also occur, typically in patients with long-standing oral mucosal chronic GVHD. This condition presents with tight bands in the buccal mucosa. In addition to experiencing pain and disability, patients can have difficulty maintaining oral hygiene, and provision of dental care can be challenging.

###### Diagnosis and management of oral chronic GVHD

The presence of lacy white changes in the oral cavity is diagnostic for chronic GVHD, according to the National Institutes of Health Consensus.[11] Biopsy is rarely necessary for diagnosis. Ancillary management of oral mucosal chronic GVHD includes topical steroids and topical tacrolimus. Patients often avoid bothersome foods and drinks.[12]

Table 8. Management of Oral Chronic Graft-Versus-Host Disease^a^

Oral Complications | Management Considerations | Long-Term Follow-Up Considerations
Mucosal lichenoid changes | Topical corticosteroids | Increased risk of oral squamous cell carcinoma; cancer screening
Mucosal lichenoid changes | Intralesional corticosteroid therapy | Increased risk of oral squamous cell carcinoma; cancer screening
Mucosal lichenoid changes | Topical tacrolimus | Increased risk of oral squamous cell carcinoma; cancer screening
Mucosal lichenoid changes | Topical analgesics | Increased risk of oral squamous cell carcinoma; cancer screening
Mucosal lichenoid changes | Children’s toothpaste | Increased risk of oral squamous cell carcinoma; cancer screening
Mucosal lichenoid changes | Avoidance of spicy, acidic, and hard/crunchy foods and drinks | Increased risk of oral squamous cell carcinoma; cancer screening
Salivary gland hypofunction | Topical fluoride | Dental follow-up at least annually (risk of dental caries); monitoring of tooth development in children
Salivary gland hypofunction | Sialogogue therapy | Dental follow-up at least annually (risk of dental caries); monitoring of tooth development in children
Salivary gland hypofunction | Over-the-counter dry mouth products
Salivary gland hypofunction | Sugar-free gum/candy
Salivary gland hypofunction | Education regarding preventive practices
Salivary gland hypofunction | Management of recurrent candidiasis
Sclerodermatous chronic graft-versus-host disease | Physical therapy

^a^Adapted from Rizzo et al.[13] and Carpenter et al.2014,[12]

###### Other associated lesions

A wide range of oral mucosal lesions frequently arises in the context of chronic GVHD. These lesions include both benign (infectious and noninfectious) and malignant conditions.

###### Benign lesions

Herpes simplex virus and oral candidiasis can occur in the context of oral chronic GVHD owing to several factors, including generalized immunosuppression, salivary gland hypofunction, and the use of topical steroids. For more information, see the Infection section.

###### Malignant lesions

Recipients of allogeneic HSCT are at increased risk of various cancers. Posttransplant lymphoproliferative disease can present with oral features similar to those seen in other presentations of lymphoma (mass, ulceration), typically in the early posttransplant period. Patients with chronic GVHD are at increased risk of developing oral squamous cell carcinoma, with this risk increasing with time since HSCT. Cancerous and precancerous oral lesions can be difficult to distinguish from those of chronic GVHD.

#### Long-term follow-up

Recipients of HSCT (in particular, allogeneic HSCT) are encouraged to maintain good oral health and receive long-term oral health care.[3,13] Patients are instructed to brush and floss daily, and to visit a dentist at least every 6 months. Patients with GVHD and salivary hypofunction are at risk of developing dental caries and experiencing tooth loss. Children, especially those who were younger than 6 years at HSCT, are at risk of developmental abnormalities affecting the skeleton and teeth. There is a significantly increased risk of oral squamous cell carcinoma in allogeneic HSCT recipients, especially in those with a history of oral chronic GVHD.

Table 9. Diseases Commonly Treated With Hematopoietic Stem Cell Transplant^a^

Indications | Autologous Transplant | Allogeneic Transplant
Malignant indications | Multiple myeloma | Acute myeloid leukemia
Malignant indications | Non-Hodgkin lymphoma | Acute lymphoblastic leukemia
Malignant indications | Hodgkin disease | Chronic myeloid leukemia
Malignant indications | Neuroblastoma | Myelodysplastic syndromes
Malignant indications | Ovarian cancer | Myeloproliferative disorders
Malignant indications | Germ cell tumors | Non-Hodgkin lymphoma
Malignant indications | Germ cell tumors | Hodgkin disease
Malignant indications | Germ cell tumors | Chronic lymphocytic leukemia
Malignant indications | Germ cell tumors | Multiple myeloma
Nonmalignant indications | Autoimmune diseases | Aplastic anemia
Nonmalignant indications | Amyloidosis | Paroxysmal nocturnal hemoglobinuria
Nonmalignant indications | | Fanconi anemia
Nonmalignant indications | | Diamond-Blackfan anemia
Nonmalignant indications | | Thalassemia major
Nonmalignant indications | | Sickle cell anemia
Nonmalignant indications | | Severe combined immunodeficiency
Nonmalignant indications | | Wiskott-Aldrich syndrome
Nonmalignant indications | | Inborn errors of metabolism

^a^Adapted from Copelan et al.[14].

### References

Majhail NS, Farnia SH, Carpenter PA, et al.: Indications for Autologous and Allogeneic Hematopoietic Cell Transplantation: Guidelines from the American Society for Blood and Marrow Transplantation. Biol Blood Marrow Transplant 21 (11): 1863-1869, 2015.26256941
Elad S, Raber-Durlacher JE, Brennan MT, et al.: Basic oral care for hematology-oncology patients and hematopoietic stem cell transplantation recipients: a position paper from the joint task force of the Multinational Association of Supportive Care in Cancer/International Society of Oral Oncology (MASCC/ISOO) and the European Society for Blood and Marrow Transplantation (EBMT). Support Care Cancer 23 (1): 223-36, 2015.25189149
Guideline on Dental Management of Pediatric Patients Receiving Chemotherapy, Hematopoietic Cell Transplantation, and/or Radiation Therapy. Pediatr Dent 38 (6): 334-342, 2016.27931474
Bogusławska-Kapała A, Hałaburda K, Rusyan E, et al.: Oral health of adult patients undergoing hematopoietic cell transplantation. Pre-transplant assessment and care. Ann Hematol 96 (7): 1135-1145, 2017.28194493
Bollero P, Passarelli PC, D'Addona A, et al.: Oral management of adult patients undergoing hematopoietic stem cell transplantation. Eur Rev Med Pharmacol Sci 22 (4): 876-887, 2018.29509233
Lalla RV, Bowen J, Barasch A, et al.: MASCC/ISOO clinical practice guidelines for the management of mucositis secondary to cancer therapy. Cancer 120 (10): 1453-61, 2014.24615748
Sung L, Robinson P, Treister N, et al.: Guideline for the prevention of oral and oropharyngeal mucositis in children receiving treatment for cancer or undergoing haematopoietic stem cell transplantation. BMJ Support Palliat Care 7 (1): 7-16, 2017.25818385
Cinausero M, Aprile G, Ermacora P, et al.: New Frontiers in the Pathobiology and Treatment of Cancer Regimen-Related Mucosal Injury. Front Pharmacol 8: 354, 2017.28642709
Lee SJ: Classification systems for chronic graft-versus-host disease. Blood 129 (1): 30-37, 2017.27821503
Ion D, Stevenson K, Woo SB, et al.: Characterization of oral involvement in acute graft-versus-host disease. Biol Blood Marrow Transplant 20 (11): 1717-21, 2014.24979731
Jagasia MH, Greinix HT, Arora M, et al.: National Institutes of Health Consensus Development Project on Criteria for Clinical Trials in Chronic Graft-versus-Host Disease: I. The 2014 Diagnosis and Staging Working Group report. Biol Blood Marrow Transplant 21 (3): 389-401.e1, 2015.25529383
Carpenter PA, Kitko CL, Elad S, et al.: National Institutes of Health Consensus Development Project on Criteria for Clinical Trials in Chronic Graft-versus-Host Disease: V. The 2014 Ancillary Therapy and Supportive Care Working Group Report. Biol Blood Marrow Transplant 21 (7): 1167-87, 2015.25838185
Rizzo JD, Wingard JR, Tichelli A, et al.: Recommended screening and preventive practices for long-term survivors after hematopoietic cell transplantation: joint recommendations of the European Group for Blood and Marrow Transplantation, Center for International Blood and Marrow Transplant Research, and the American Society for Blood and Marrow Transplantation (EBMT/CIBMTR/ASBMT). Bone Marrow Transplant 37 (3): 249-61, 2006.16435004
Copelan EA: Hematopoietic stem-cell transplantation. N Engl J Med 354 (17): 1813-26, 2006.16641398

## Oral Management of Patients Receiving Targeted Therapy/Cancer Immunotherapy

### Targeted Therapy

Targeted therapy acts either directly on specific tissues, cells, and/or genes or indirectly on growth-related tissues and the nutrition of cancer cells. Antiangiogenesis therapies can suppress the formation of new blood vessels that nourish cancer tissue, preventing its growth.[1,2]

Table 10. Oral Management of Patients Receiving Targeted Cancer Therapy or Immunotherapy

Before Cancer Therapy | During Cancer Therapy | After Cancer Therapy
Document baseline oral mucosal status | Assess number and severity of oral mucosal lesions clinically documented to be caused by targeted therapy/immunotherapy | Monitor for possible late adverse oral effects
Provide patient education | Provide topical, intralesional, or systemic steroid treatment if oral pain is severe | Targeted therapy: Monitor for and treat gingival bleeding, necrotizing ulcerative gingivitis, stomatitis, aphthous-like ulcers, hyperkeratosis
Provide patient education | Provide topical, intralesional, or systemic steroid treatment if oral pain is severe | Immunotherapy: Monitor for and treat lichenoid reactions (ulcerative or reticular), benign membrane pemphigoid, xerostomia, taste changes
Provide patient education | Provide topical, intralesional, or systemic steroid treatment if oral pain is severe | Oral lesions are common for both classes of medications; consider in differential diagnosis of candidiasis and herpes simplex infections, medication-related osteonecrosis of the jaw

As with other cancer therapy modalities, targeted therapy has toxicities inherent to the drug group. Among the most significant side effects are the cutaneous adverse effects.[3][Level of evidence: IV] The oral side effects are seen in more than 20% of patients. In severe cases, there is an indication of dose reduction or permanent treatment discontinuation.[3-5]

Table 11. Oral Toxicities of Cancer Drugs

Cancer Drug | Oral Side Effects
mTOR [6 ,4,5,7-9] | Stomatitis, gingival bleeding, gingivitis, periodontal abscess, MRONJ, benign migratory glossitis, dysgeusia, xerostomia
EGFR [4,8] | Mucositis, dysgeusia, xerostomia
VEGF [4,5,10] | Gingival bleeding, MRONJ, mucositis, benign migratory glossitis
Sunitinib-VEGF receptors [4,5] | Gingival bleeding, painful soft tissue necrosis, MRONJ, altered taste, dry mouth, mucosal sensitivity, oral pain, oral mucositis/stomatitis, benign migratory glossitis, xerostomia
PDGF receptors [6 ,7] | Associated with MRONJ, liquenoid lesions, and necrosis
BRAF inhibitors [4,5] | MRONJ, hyperkeratotic lesions
Imatinib [4,8] | MRONJ, erythema and atrophy of tissue, pigmentary changes and lichenoid reaction, mucositis, dysgeusia

EGFR = epidermal growth factor receptor; MRONJ = medication-related osteonecrosis of the jaw; mTOR = mechanistic target of rapamycin; PDGF = platelet-derived growth factor; VEGF = vascular endothelial growth factor.

### Cancer Immunotherapy

Immunotherapies have a different profile than targeted therapies and a new spectrum of toxicities compared with cytotoxic agents. The mechanism of action of immune checkpoint inhibitors involves triggering cytotoxic T-cell activation and inducing a specific toxicity profile that is primarily of immunologic origin. The most commonly reported immune-related systemic adverse events include the following:[11,12][Level of evidence: IV]

- Dermatitis.
- Enterocolitis.
- Liver toxicities.
- Endocrinopathies.
- Pneumonitis.
- Renal toxicity and other less common toxicities.

Reports of oral complications related to immunotherapies are sparse in the literature and most often include xerostomia, dysgeusia, and lichenoid reactions.[4,13] Other side effects are bullous skin eruptions. Two cases of Stevens-Johnson syndrome with severe hemorrhagic cheilitis and erosions have been reported.[14-16]

Table 12. Systemic and Oral Toxicities of Cancer Immunotherapy

Side Effects | Systemic Toxicities | Oral Toxicities
Acute side effects | Dermatitis | Lichenoid reactions; other immune-related lesions; xerostomia; taste changes; infections such as candidiasis and herpes simplex; osteonecrosis of the jaw
Acute side effects | Lichenoid lesions | Lichenoid reactions; other immune-related lesions; xerostomia; taste changes; infections such as candidiasis and herpes simplex; osteonecrosis of the jaw
Acute side effects | Bullous eruptions | Lichenoid reactions; other immune-related lesions; xerostomia; taste changes; infections such as candidiasis and herpes simplex; osteonecrosis of the jaw
Acute side effects | Stevens-Johnson syndrome | Lichenoid reactions; other immune-related lesions; xerostomia; taste changes; infections such as candidiasis and herpes simplex; osteonecrosis of the jaw
Acute side effects | Enterocolitis clinical expressed as diarrhea, liver toxicity | Lichenoid reactions; other immune-related lesions; xerostomia; taste changes; infections such as candidiasis and herpes simplex; osteonecrosis of the jaw
Acute side effects | Endocrinopathies such as hypophysitis, thyroiditis, uveitis, pneumonitis, renal toxicity, infections, neurological events | Lichenoid reactions; other immune-related lesions; xerostomia; taste changes; infections such as candidiasis and herpes simplex; osteonecrosis of the jaw
Delayed events | Pneumonitis

The largest reported series of oral immune-related lichenoid reactions included ten cases.[17] Four patients also showed skin, nail, or genital lesions. Tenderness and/or irritation and xerostomia were present in three patients. The lesions were self-limited and low grade, did not lead to discontinuation or interruption in oncologic treatment, and improved after several weeks of topical corticosteroid treatment. The authors reported that oral lichenoid reactions were common in their clinical practice.

Exacerbations of preexisting autoimmune disease have been reported and necessitated systemic treatment. A detailed history of preexisting autoimmune disease and vigilant clinical monitoring are important for these patients.[18-21]

Osteonecrosis related to immunotherapy alone has rarely been reported.[3,22] However, with the increasing use of combinations of medications, clinicians should remain alert for these complications.

Cancer immunotherapy can cause other side effects, which may be acute or delayed.

Consequences of cancer immunotherapy oral side effects and toxicities include the following:

- Therapy dose modifications or discontinuation.
- Inadequate food intake and diet changes.
- Poor oral health.
  - Risk of oral infections.
  - Increased dental caries.
  - Need for dental extractions.
- Weight loss.

Clinicians should be aware of immune-related oral adverse events. Routine evaluation of the oral cavity should be incorporated into the care of all patients, particularly those who are already at risk of oral complications—for example, patients with head and neck cancer who receive radiation therapy and patients who receive bone-targeting agents, targeted therapies (mainly inhibitors of angiogenesis), and other drugs.

#### Before targeted therapy/cancer immunotherapy

A patient's medical history report will disclose any preexisting autoimmune oral disease. As in any cancer therapy, oral and dental examination and stabilization are mandatory. Patient education on the importance of good oral health and oral hygiene is needed.[23-25]

#### During targeted therapy/cancer immunotherapy

Oral management during targeted therapy follows the same guidelines as those used for chronic graft-versus-host disease in patients with hematological conditions after bone marrow transplant.[23] Patients are encouraged to maintain good oral hygiene and to report any symptoms. If an oral lesion is suspected or diagnosed, the dentist will refer the patient to an oral oncology clinic and communicate this information to the treating oncologist. Early intervention and continued monitoring are required to limit exacerbation of the oral changes. Mucosal changes may be managed with topical anti-inflammatory agents. Severe cases may require systemic steroids. Dysplasia in lichenoid lesions is possible. If mucosal pain is present, topical analgesics may be considered. Dry mouth may include treatment with mouth-wetting agents and management of dental caries risk in the presence of hyposalivation, as well as prevention and management of oral candidiasis, herpes simplex, or other oral infections.[26]

#### After targeted therapy/cancer immunotherapy

Follow-up after targeted therapy or immunotherapy is important, as late adverse events may develop. The increased use of combination treatment may disclose new adverse events that have not yet been recognized.

Having an oral specialist on the oncology team greatly helps in the description, identification, early diagnosis, and timely and successful management of oral side effects related to immunotherapies alone or combined with other biological therapies.

### References

National Cancer Institute: Targeted Therapy to Treat Cancer. Bethesda, Md: National Institutes of Health, 2022. Available online (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies/targeted-therapies-fact-sheet). Last accessed Feb. 14, 2024.
Carrington C: Oral targeted therapy for cancer. Aust Prescr 38 (5): 171-6, 2015.26648656
Nicolatou-Galitis O, Kouri M, Papadopoulou E, et al.: Osteonecrosis of the jaw related to non-antiresorptive medications: a systematic review. Support Care Cancer 27 (2): 383-394, 2019.30353228
Vigarios E, Epstein JB, Sibaud V: Oral mucosal changes induced by anticancer targeted therapies and immune checkpoint inhibitors. Support Care Cancer 25 (5): 1713-1739, 2017.28224235
Lacouture M, Sibaud V: Toxic Side Effects of Targeted Therapies and Immunotherapies Affecting the Skin, Oral Mucosa, Hair, and Nails. Am J Clin Dermatol 19 (Suppl 1): 31-39, 2018.30374901
Gomez-Fernandez C, Garden BC, Wu S, et al.: The risk of skin rash and stomatitis with the mammalian target of rapamycin inhibitor temsirolimus: a systematic review of the literature and meta-analysis. Eur J Cancer 48 (3): 340-6, 2012.22206873
Boers-Doets CB, Epstein JB, Raber-Durlacher JE, et al.: Oral adverse events associated with tyrosine kinase and mammalian target of rapamycin inhibitors in renal cell carcinoma: a structured literature review. Oncologist 17 (1): 135-44, 2012.22207567
Watters AL, Epstein JB, Agulnik M: Oral complications of targeted cancer therapies: a narrative literature review. Oral Oncol 47 (6): 441-8, 2011.21514211
Martins F, de Oliveira MA, Wang Q, et al.: A review of oral toxicity associated with mTOR inhibitor therapy in cancer patients. Oral Oncol 49 (4): 293-8, 2013.23312237
Nicolatou-Galitis O, Migkou M, Psyrri A, et al.: Gingival bleeding and jaw bone necrosis in patients with metastatic renal cell carcinoma receiving sunitinib: report of 2 cases with clinical implications. Oral Surg Oral Med Oral Pathol Oral Radiol 113 (2): 234-8, 2012.22669112
Michot JM, Bigenwald C, Champiat S, et al.: Immune-related adverse events with immune checkpoint blockade: a comprehensive review. Eur J Cancer 54: 139-148, 2016.26765102
Wang PF, Chen Y, Song SY, et al.: Immune-Related Adverse Events Associated with Anti-PD-1/PD-L1 Treatment for Malignancies: A Meta-Analysis. Front Pharmacol 8: 730, 2017.29093678
Nikolaou V, Voudouri D, Tsironis G, et al.: Cutaneous toxicities of antineoplastic agents: data from a large cohort of Greek patients. Support Care Cancer 27 (12): 4535-4542, 2019.30919155
Jour G, Glitza IC, Ellis RM, et al.: Autoimmune dermatologic toxicities from immune checkpoint blockade with anti-PD-1 antibody therapy: a report on bullous skin eruptions. J Cutan Pathol 43 (8): 688-96, 2016.27086658
Saw S, Lee HY, Ng QS: Pembrolizumab-induced Stevens-Johnson syndrome in non-melanoma patients. Eur J Cancer 81: 237-239, 2017.28438440
Salati M, Pifferi M, Baldessari C, et al.: Stevens-Johnson syndrome during nivolumab treatment of NSCLC. Ann Oncol 29 (1): 283-284, 2018.29045532
Sibaud V, Eid C, Belum VR, et al.: Oral lichenoid reactions associated with anti-PD-1/PD-L1 therapies: clinicopathological findings. J Eur Acad Dermatol Venereol 31 (10): e464-e469, 2017.28419570
Johnson DB, Sullivan RJ, Ott PA, et al.: Ipilimumab Therapy in Patients With Advanced Melanoma and Preexisting Autoimmune Disorders. JAMA Oncol 2 (2): 234-40, 2016.26633184
Danlos FX, Voisin AL, Dyevre V, et al.: Safety and efficacy of anti-programmed death 1 antibodies in patients with cancer and pre-existing autoimmune or inflammatory disease. Eur J Cancer 91: 21-29, 2018.29331748
Ijaz A, Khan AY, Malik SU, et al.: Significant Risk of Graft-versus-Host Disease with Exposure to Checkpoint Inhibitors before and after Allogeneic Transplantation. Biol Blood Marrow Transplant 25 (1): 94-99, 2019.30195074
Economopoulou P, Nicolatou-Galitis O, Kotsantis I, et al.: Nivolumab-related lichen planus of the lip in a patient with head and neck cancer. Oral Oncol 104: 104623, 2020.32144002
Nifosì AF, Zuccarello M, Nifosì L, et al.: Osteonecrosis of the jaw in the era of targeted therapy and immunotherapy in oncology. J Korean Assoc Oral Maxillofac Surg 45 (1): 3-8, 2019.30847290
Epstein JB, Smutzer G, Doty RL: Understanding the impact of taste changes in oncology care. Support Care Cancer 24 (4): 1917-31, 2016.26820877
Elad S, Jensen SB, Raber-Durlacher JE, et al.: Clinical approach in the management of oral chronic graft-versus-host disease (cGVHD) in a series of specialized medical centers. Support Care Cancer 23 (6): 1615-22, 2015.25417041
Elad S, Raber-Durlacher JE, Brennan MT, et al.: Basic oral care for hematology-oncology patients and hematopoietic stem cell transplantation recipients: a position paper from the joint task force of the Multinational Association of Supportive Care in Cancer/International Society of Oral Oncology (MASCC/ISOO) and the European Society for Blood and Marrow Transplantation (EBMT). Support Care Cancer 23 (1): 223-36, 2015.25189149
Rapoport BL, van Eeden R, Sibaud V, et al.: Supportive care for patients undergoing immunotherapy. Support Care Cancer 25 (10): 3017-3030, 2017.28707167

## Orofacial Pain in Patients With Cancer

Orofacial pain may be present throughout the cancer continuum. In patients with head and neck cancer (HNC), orofacial pain has been reported to be as high as 85% at the time of cancer diagnosis.[1];[2][Level of evidence: II][3]

Orofacial pain is frequently associated with locoregional cancer, but it can also be a sign of systemic and distant cancers. It may arise from the onset of the disease and develops as the disease progresses. Orofacial pain is also highly associated with acute-treatment side effects and may continue after treatment ends due to persistence, recurrence, or metastasis of the primary cancer or acute and chronic toxicities of cancer therapy.[4] It is important to recognize not only the diverse symptoms of orofacial pain in patients with cancer, but also pain's significant impact on their quality of life.

The management of head and neck pain and oral and oropharyngeal pain may be particularly challenging because the area is a highly innervated sensory region, and eating, speech, swallowing, and other motor functions of the head and neck and oropharynx are constant pain triggers. Classification of head and neck pain can assist in management.[5]

For more information on pain in patients with cancer, see Cancer Pain.

### Orofacial Pain Caused by Cancer Persistence, Recurrence, or Metastasis

#### Etiology and epidemiology

Pain caused by cancer is often low intensity, but it typically becomes more frequent and increasingly severe with advancing disease. Cancer pain may be caused by local tumor effects via direct invasion of adjacent structures, leading to pressure, ulceration, tissue necrosis, and perineural invasion.[6,7]

Pain may also be aggravated by distant tumors or systemic cancer activity (e.g., blood and lymphatic cancers) due to nociceptive, inflammatory, and neuropathic mechanisms. For instance, oral manifestations of blood cancers such as leukemia, lymphoma, and multiple myeloma may cause pain and loss of function by infiltrating pain-sensitive structures [5] or inducing secondary oral infections due to a compromised immune system.[8] Furthermore, intracranial malignancies may give rise to orofacial pain and headaches due to pressure or infiltration of specific brain centers and structures.

#### Signs and symptoms

In the orofacial region, pain may present similarly to classic trigeminal neuralgia/neuropathic pain or musculoskeletal temporomandibular disorders. Symptoms range from acute, localized, sharp shooting episodes to chronic, diffuse, pressing, and aching pain.[5]

Patients with nasopharyngeal and oropharyngeal cancer may report pain in the temporomandibular joint region with limited mouth opening; ear blockage, ringing, or pain; headaches; facial numbness; and masticatory muscle stiffness. These signs and symptoms may result from direct tumor invasion or represent a pattern of referred pain that can masquerade as a temporomandibular joint disorder.[9,10]

Paraneoplastic neuropathies may present in cancer patients, particularly those with lung cancer or lymphoma.[11,12][Level of evidence: IV] This effect may manifest as difficulty swallowing, slurred speech, disturbed vision, seizures, facial muscle weakness, stiffness, or unusual involuntary contractions.[12][Level of evidence: IV]

#### Diagnosis and management strategies

Meticulous clinical examination is a critical step in reporting orofacial pain or dysfunction. Pain can be reported in any structure of the craniofacial region, such as a toothache or pain in the gingiva, tongue, face, neck, ear, and pharynx.[6] Management relies mainly on treating the malignancy. Since pain caused by cancer therapy is common, further pharmacotherapeutics and supportive treatment regimens may be needed. For more information on pharmacotherapeutic interventions and supportive regimens, see the Diagnostic investigations and management strategies section.

### Orofacial Pain Caused by Cancer Management

#### Etiology and epidemiology

While surgical resection provides near complete relief of HNC-related pain, some patients require adjuvant therapies such as chemotherapy (i.e., cytotoxic agents and targeted biological agents) and/or radiation therapy to further combat the disease.[13][Level of evidence: IV] Other cancer patients may be restricted to nonsurgical interventions because of the type or extent of their cancers. Stem cell transplant, another approach for managing hematologic malignancies, can involve chemotherapy and/or total body radiation as part of the management regimen. These surgical and nonsurgical interventions, especially concomitant chemoradiotherapy, are tied to short- and long-lasting painful complications that may affect patient well-being and quality of life.[5]

More than 70% of patients with HNC report variable forms of pain during and after their cancer therapy.[5]

#### Signs and symptoms

##### Pain associated with surgical interventions

For patients with HNC undergoing surgical interventions, acute nociceptive regional orofacial pain, scar formation, and sensory impairment are inevitable. These complications increase dramatically with concomitant procedures, such as neck dissection, and may evolve to long-term, painful, postsurgical fibrosis and neuropathy.[5] Fifty percent to 90% of patients who undergo mandibulectomy or maxillectomy have regional hyperalgesia and allodynia. Pain scores following HNC surgery are the highest for the oral cavity, followed by the larynx, oropharynx, and nasopharynx. The most common locations for orofacial pain complaints are the oral cavity, followed by the temporomandibular joint, face, neck, and shoulders.[5] Musculoskeletal syndromes, including temporomandibular disorders associated with muscular fibrosis and limited jaw opening, lead to significant pain and loss of orofacial function. The persistence of these complications may severely impact cancer survivors’ quality of life and well-being.[14][Level of evidence: II];[15]Level of evidence: IV

##### Pain associated with chemotherapy and radiation therapy

Orofacial pain as a result of cancer chemotherapy and radiation therapy is a well-recognized complication that may longitudinally affect cancer survivors’ quality of life.[1,4,16,17] Generally, 60% to 80% of cancer patients experience pain during these interventions, with a significant number continuing to struggle from long-term, persistent pain complaints after the completion of therapy.[18]

Severe peripheral neurotoxicity leads to neuropathic orofacial pain, changes in taste, and loss of sensory perception and motor coordination. Localized oral burning pain, comparable to burning mouth syndrome, can also occur. Cytotoxic effects of chemotherapy and radiation therapy may cause oral mucositis. For more information, see the Oral mucositis (high-dose chemotherapy, HSCT, head and neck radiation) section. Oral ulcerations due to neutropenia or oral bacterial, fungal, and viral infections are other examples of common, acute, painful complications encountered during and after anticancer therapy.[13,19] In addition, compromised immune function may lead to reactivation of dormant herpes viruses, causing painful oral and para-oral lesions. Postherpetic neuralgia, if emerged, can cause chronic dysesthesias in the affected area that may persist for years.[20] Moreover, hyposalivation, especially in those receiving head and neck radiation, may enhance susceptibility to oral candidiasis and rampant caries.[21][Level of evidence: II]

Several targeted biological agents, such as tyrosine-kinase inhibitors and immune checkpoint inhibitors, have proven efficacy in managing patients with cancer. In the orofacial pain region, these therapies may cause taste alterations, aphthous-like ulceration, and mucosal lichenoid reactions.[22][Level of evidence: III];[23] Combinations of multiple agents may result in increasingly complex mucosal changes and related symptoms.[5,22] For more information, see the Oral management during targeted therapy/cancer immunotherapy section.

When they occur during cancer therapy, these complications can negatively affect patients’ nutritional status and lead to undesired interruption or reduction of the dose or frequency of the cancer treatment regimen.[17,24] Furthermore, the long-term impact of anticancer therapy may significantly compromise the physical, psychological, and financial well-being of cancer survivors.[25-27][Level of evidence: II]

##### Pain associated with stem cell transplant therapy

Graft-versus-host disease is a common complication of allogeneic hematopoietic stem cell transplant, occurring in 25% to 70% of patients and presenting in both acute and chronic forms. Head and neck involvement is manifested as mucosal striation/ulceration, superficial mucocele, and temporomandibular joint arthritic dysfunction that are often painful.[20,28] Additionally, increased thermal sensitivity has been observed in patients being treated with cyclosporine after their hematopoietic stem cell transplants.[29][Level of evidence: III]

#### Oral mucositis

For information on oral mucositis, see the Oral mucositis (high-dose chemotherapy, HSCT, head and neck radiation) section.

#### Diagnostic investigations and management strategies

As cancer pain is mixed in nature and presentation, specific screening and assessment questionnaires are useful in differentiating nociceptive and neuropathic pain and help to better manage orofacial pain. In the oncology setting, it is important that a thorough health history and oral physical examination be performed when oral pain is present. The role of routine high-maintenance levels of oral hygiene cannot be understated. Radiographic imaging and vitality testing of the dental pulp are typically necessary.[13]

Persistent neuropathies are a common complication after HNC surgical interventions and radiation therapies.[13,30] Selected classes of chemotherapy, such as vinca alkaloids, vincristine, vinblastine, platinum-based drugs, taxanes, and targeted biological agents, can also cause direct neurotoxicity.[13,31] Additionally, drugs such as thalidomide and lenalidomide are associated with peripheral neuropathies that can affect the orofacial region. Deeply-seated mandibular pain may be of dental etiology as a consequence of pulpal neurotoxicity or necrosis.

Management of neuropathic orofacial pain is complex and challenging, often involving centrally and peripherally acting pharmacotherapeutic agents. Topical and systemic gabapentinoids, membrane stabilizers, small doses of tricyclic antidepressants, selective serotonin-norepinephrine reuptake inhibitors, vanilloid receptor inhibitors, and cannabinoids are often prescribed.[32][Level of evidence: I];[33][Level of evidence: IV];[34,35] Supportive approaches such as counseling, acupuncture, photobiomodulation, and neurosensory stents may also be considered. Preventive measures such as physical shielding and cryotherapy should be considered before and during anticancer therapy to reduce cytotoxic and neurotoxic outcomes.[36]

Dental hypersensitivity may occasionally arise in the weeks or months after the discontinuation of chemotherapy and/or radiation therapy.[13] Topical application of fluorides and desensitizing agents may ameliorate dental discomfort.[13] In most instances, thermal sensitivity observed in patients who received hematopoietic stem cell transplant is self-resolving after discontinuation of cyclosporine.[29][Level of evidence: III]

Patients may also experience musculoskeletal pain and dysfunction involving muscles of mastication, the neck, and/or the temporomandibular joints.[37] These conditions may be further aggravated by stress, sleep disturbance, and parafunctional habits (i.e., bruxism and clenching) after treatment of HNC.[38][Level of evidence: IV] Physical management of orofacial pain, including cold compresses or moist heat combined with physical therapy, custom occlusal splints, and masticatory/neck muscle exercises, help significantly. Judicious use of muscle relaxants or anxiolytic agents can be considered. Acupuncture, transcutaneous nerve stimulation, low-level laser use, and massage therapy are adjuvant modalities to alleviate pain in patients with cancer.[39,40][Level of evidence: I];[41][Level of evidence: I] For more information, see Acupuncture.

Additionally, psychological approaches such as counseling, distraction, relaxation techniques, biofeedback, group therapy, self-hypnosis, imagery, and cognitive behavioral training programs have shown promising results in randomized clinical trials.[39,42][Level of evidence: I];[43][Level of evidence: I]

### References

Holländer-Mieritz C, Johansen J, Johansen C, et al.: Comparing the patients' subjective experiences of acute side effects during radiotherapy for head and neck cancer with four different patient-reported outcomes questionnaires. Acta Oncol 58 (5): 603-609, 2019.30698098
Carpén T, Sjöblom A, Lundberg M, et al.: Presenting symptoms and clinical findings in HPV-positive and HPV-negative oropharyngeal cancer patients. Acta Otolaryngol 138 (5): 513-518, 2018.29161981
Saunders DP, Epstein JB, Elad S, et al.: Systematic review of antimicrobials, mucosal coating agents, anesthetics, and analgesics for the management of oral mucositis in cancer patients. Support Care Cancer 21 (11): 3191-207, 2013.23832272
Saunders DP, Rouleau T, Cheng K, et al.: Systematic review of antimicrobials, mucosal coating agents, anesthetics, and analgesics for the management of oral mucositis in cancer patients and clinical practice guidelines. Support Care Cancer 28 (5): 2473-2484, 2020.32052137
Epstein JB, Miaskowski C: Oral Pain in the Cancer Patient. J Natl Cancer Inst Monogr 2019 (53): , 2019.31425595
Romero-Reyes M, Teruel A, Ye Y: Cancer and Referred Facial Pain. Curr Pain Headache Rep 19 (8): 37, 2015.26088459
Schmidt BL: The Neurobiology of Cancer Pain. J Oral Maxillofac Surg 73 (12 Suppl): S132-5, 2015.26608142
Silva TD, Ferreira CB, Leite GB, et al.: Oral manifestations of lymphoma: a systematic review. Ecancermedicalscience 10: 665, 2016.27594910
Jamal Zohaib, Anjum Fatima: Oropharyngeal Squamous Cell Carcinoma. In: StatPearls [Internet]. StatPearls Publishing, 2024, Treasure Island, FL: StatsPearls [Internet], 2023. Available online (https://www.ncbi.nlm.nih.gov/books/NBK563268/). Last accessed October 10, 2023.
Shah Abdul B., Nagalli Shivaraj: Nasopharyngeal Carcinoma. In: StatPearls [Internet]. StatPearls Publishing, 2024, Treasure Island, FL: StatPearls [Internet], 2023. Available online (https://www.ncbi.nlm.nih.gov/books/NBK554588/). Last accessed October 10, 2023.
Antoine JC, Camdessanché JP: Paraneoplastic neuropathies. Curr Opin Neurol 30 (5): 513-520, 2017.28682959
Zoccarato M, Grisold W, Grisold A, et al.: Paraneoplastic Neuropathies: What's New Since the 2004 Recommended Diagnostic Criteria. Front Neurol 12: 706169, 2021.34659082
Sroussi HY, Epstein JB, Bensadoun RJ, et al.: Common oral complications of head and neck cancer radiation therapy: mucositis, infections, saliva change, fibrosis, sensory dysfunctions, dental caries, periodontal disease, and osteoradionecrosis. Cancer Med 6 (12): 2918-2931, 2017.29071801
Pauli N, Mejersjö C, Fagerberg-Mohlin B, et al.: Temporomandibular disorder in head and neck cancer patients undergoing radiotherapy: Clinical findings and patient-reported symptoms. Head Neck 41 (10): 3570-3576, 2019.31313400
Nicot R, Raoul G, Ferri J, et al.: Temporomandibular disorders in head and neck cancers: Overview of specific mechanisms and management. J Stomatol Oral Maxillofac Surg 121 (5): 563-568, 2020.32151696
Schmitd LB, Scanlon CS, D'Silva NJ: Perineural Invasion in Head and Neck Cancer. J Dent Res 97 (7): 742-750, 2018.29443582
Jones JA, Chavarri-Guerra Y, Corrêa LBC, et al.: MASCC/ISOO expert opinion on the management of oral problems in patients with advanced cancer. Support Care Cancer 30 (11): 8761-8773, 2022.35717462
Mirabile A, Airoldi M, Ripamonti C, et al.: Pain management in head and neck cancer patients undergoing chemo-radiotherapy: Clinical practical recommendations. Crit Rev Oncol Hematol 99: 100-6, 2016.26712589
Binczak M, Navez M, Perrichon C, et al.: Management of somatic pain induced by head-and-neck cancer treatment: definition and assessment. Guidelines of the French Oto-Rhino-Laryngology- Head and Neck Surgery Society (SFORL). Eur Ann Otorhinolaryngol Head Neck Dis 131 (4): 243-7, 2014.25108356
Vickers ER, Karsten E, Flood J, et al.: A preliminary report on stem cell therapy for neuropathic pain in humans. J Pain Res 7: 255-63, 2014.24855388
Lin A, Helgeson ES, Treister NS, et al.: The impact of head and neck radiotherapy on salivary flow and quality of life: Results of the ORARAD study. Oral Oncol 127: 105783, 2022.35231809
Shazib MA, Woo SB, Sroussi H, et al.: Oral immune-related adverse events associated with PD-1 inhibitor therapy: A case series. Oral Dis 26 (2): 325-333, 2020.31642136
Carrozzo M, Eriksen JG, Bensadoun RJ, et al.: Oral Mucosal Injury Caused by Targeted Cancer Therapies. J Natl Cancer Inst Monogr 2019 (53): , 2019.31425602
Hunter M, Kellett J, Toohey K, et al.: Toxicities Caused by Head and Neck Cancer Treatments and Their Influence on the Development of Malnutrition: Review of the Literature. Eur J Investig Health Psychol Educ 10 (4): 935-949, 2020.34542427
Han X, Zhao J, Zheng Z, et al.: Medical Financial Hardship Intensity and Financial Sacrifice Associated with Cancer in the United States. Cancer Epidemiol Biomarkers Prev 29 (2): 308-317, 2020.31941708
Yabroff KR, Bradley C, Shih YT: Understanding Financial Hardship Among Cancer Survivors in the United States: Strategies for Prevention and Mitigation. J Clin Oncol 38 (4): 292-301, 2020.31804869
Utley M, Adeyanju T, Bernardo B, et al.: The association between mental health, social support and physical health outcomes among older female cancer survivors. J Geriatr Oncol 13 (6): 834-838, 2022.35430188
Fall-Dickson JM, Pavletic SZ, Mays JW, et al.: Oral Complications of Chronic Graft-Versus-Host Disease. J Natl Cancer Inst Monogr 2019 (53): , 2019.31425593
Epstein JB, Raber-Durlacher JE, Epstein GL, et al.: Chronic oral graft-versus-host disease: induction and maintenance therapy with photobiomodulation therapy. Support Care Cancer 29 (3): 1387-1394, 2021.32666212
Van den Bosch L, van der Schaaf A, van der Laan HP, et al.: Comprehensive toxicity risk profiling in radiation therapy for head and neck cancer: A new concept for individually optimised treatment. Radiother Oncol 157: 147-154, 2021.33545258
Brook I: Early side effects of radiation treatment for head and neck cancer. Cancer Radiother 25 (5): 507-513, 2021.33685809
Smith DK, Cmelak A, Niermann K, et al.: Preventive use of gabapentin to decrease pain and systemic symptoms in patients with head and neck cancer undergoing chemoradiation. Head Neck 42 (12): 3497-3505, 2020.32770612
Häuser W, Finn DP, Kalso E, et al.: European Pain Federation (EFIC) position paper on appropriate use of cannabis-based medicines and medical cannabis for chronic pain management. Eur J Pain 22 (9): 1547-1564, 2018.30074291
Häuser W, Finnerup NB, Moore RA: Systematic reviews with meta-analysis on cannabis-based medicines for chronic pain: a methodological and political minefield. Pain 159 (10): 1906-1907, 2018.29847473
Mücke M, Phillips T, Radbruch L, et al.: Cannabis-based medicines for chronic neuropathic pain in adults. Cochrane Database Syst Rev 3 (3): CD012182, 2018.29513392
de Pauli Paglioni M, Alves CGB, Fontes EK, et al.: Is photobiomodulation therapy effective in reducing pain caused by toxicities related to head and neck cancer treatment? A systematic review. Support Care Cancer 27 (11): 4043-4054, 2019.31264186
Brook I: Late side effects of radiation treatment for head and neck cancer. Radiat Oncol J 38 (2): 84-92, 2020.33012151
Buglione M, Cavagnini R, Di Rosario F, et al.: Oral toxicity management in head and neck cancer patients treated with chemotherapy and radiation: Xerostomia and trismus (Part 2). Literature review and consensus statement. Crit Rev Oncol Hematol 102: 47-54, 2016.27061883
Bennett MI, Eisenberg E, Ahmedzai SH, et al.: Standards for the management of cancer-related pain across Europe-A position paper from the EFIC Task Force on Cancer Pain. Eur J Pain 23 (4): 660-668, 2019.30480345
Wan Q, Chen H, Wang X, et al.: Effectiveness of different acupuncture therapies for chronic cancer pain: A protocol for systematic review and Bayesian network meta-analysis. Medicine (Baltimore) 101 (4): e27965, 2022.35089187
Dymackova R, Selingerova I, Kazda T, et al.: Effect of Acupuncture in Pain Management of Head and Neck Cancer Radiotherapy: Prospective Randomized Unicentric Study. J Clin Med 10 (5): , 2021.33799949
Abbas Q, Arooj N, Baig KB, et al.: A clinical trial of cognitive behavior therapy for psychiatric comorbidity and quality of life with Cancer Patients during Chemotherapy (CPdC). BMC Psychiatry 22 (1): 222, 2022.35351037
Okuyama T, Akechi T, Mackenzie L, et al.: Psychotherapy for depression among advanced, incurable cancer patients: A systematic review and meta-analysis. Cancer Treat Rev 56: 16-27, 2017.28453966

## Infection

The intactness of skin and mucosa are physical barriers to infection. The epithelium of the oral mucosa impedes the attachment of pathogenic organisms by shedding dead cells and pathogens. This process limits the penetration of many compounds into the epithelium by maintaining a chemical barrier of antimicrobial molecules. These molecules are part of salivary protection and saliva, which are also responsible for protectively cleaning the teeth and mucosa and maintaining neutral pH, and lubrication.[1]

Oral infections in cancer patients could be caused by a preexisting acute oral infection before the therapy is administered; therefore, control and elimination of these infections play a crucial role.[2] Other infections typically arise in the setting of the immunocompromised host response during therapy.

Oral mucositis is a common complication of cancer therapy. In addition to causing severe pain and nutritional impairment, there is an increased risk of local and systemic infections.[3] Oral mucositis can be complicated by infection in immunocompromised patients. Importantly, disruption of the oral mucosa provides a major route of entry for pathological microorganisms. This situation can lead to various infections, including fatal septicemia.[4] For more information, see the Oral mucositis (high-dose chemotherapy, HSCT, head and neck radiation) section.

Both indigenous oral flora and hospital-acquired pathogens have been associated with bacteremias and systemic infection. As the absolute neutrophil count falls below 1,000/µL, the incidence and severity of infection rise. Patients with prolonged neutropenia are at higher risk of developing serious infectious complications. The rate and severity of these infections mostly depend on prolonged periods of neutropenia (more than 7 days).[5][Level of evidence: IV] Compromised salivary function and poor oral hygiene alter oral microbial flora and increase oral microbial load, making patients susceptible to opportunistic bacterial, viral, and fungal infections. Patients have a higher risk of developing odontogenic infections if they do not receive prompt care for any dental or periodontal disorder.[6]

Other oral sites, including the dentition, periapices, and periodontium, can also become acutely infected during myelosuppression secondary to high-dose chemotherapy.[2]

A literature search was conducted in the MEDLINE/PubMed and EMBASE databases for articles published between 2009 and 2016. Dental-related infections and abscesses during cancer therapy (primarily antineoplastic chemotherapy) were reported in six studies. The mean weighted prevalence was 5.4% (standard of error, 1.16; 95% confidence interval, 3.14–7.7).[7]

Dental management undertaken before cytoreductive therapy can substantially reduce the risk of infectious complications.[2] Researchers have shifted toward the idea that if there is a close relationship between the dental and oncology team, clearance of only acute infection before cancer therapy has similar results as completed dental management regarding oral infection during myelosuppression.[8][Level of evidence: II];[2,9][Level of evidence: III]

### Bacterial Infections

Changes in infection profiles in patients with cancer-related myelosuppression have occurred over the past three decades. Multiple factors have caused this evolving epidemiology, including the use of prophylactic and therapeutic antimicrobial regimens and decreased depth and duration of myelosuppression.[10] Gram-positive organisms, including Viridans streptococci and Enterococci species, are associated with systemic infection of oral origin. In addition, gram-negative pathogens, including Pseudomonas aeruginosa, Neisseria species, and Escherichia coli, remain a concern.

Myeloablated cancer patients with chronic periodontal disease may develop acute periodontal infections, with associated systemic sequelae.[11-13]

Pulpal/periapical infections of dental origin can cause complications for the chemotherapy patient and need to be resolved before chemotherapy begins.[14,15]

### Fungal Infections

#### Candidiasis

Candidiasis is typically caused by opportunistic overgrowth of Candida albicans, a normal inhabitant of the oral cavity in many individuals. Several variables contribute to its clinical expression, including drug- or disease-induced immunosuppression, mucosal injury, and salivary compromise. In addition, the use of antibiotics may alter the oral flora, creating a favorable environment for fungal overgrowth.[16,17][Level of evidence: IV]

The weighted mean prevalence of clinical oral fungal infection during chemotherapy or head and neck radiation therapy was found to be 31% in a retrospective multicenter study.[18][Level of evidence: III] The appearance of erythematous candidiasis is relatively nonspecific, and laboratory testing may be needed to confirm the diagnosis. It may be accompanied by a burning sensation of the affected tissues.[16]

Although topical agents may be helpful for superficial oral candidiasis, systemic agents are used for persistent fungal infections and in patients with significant immunosuppression. Systemic fluconazole is highly effective for prophylaxis and treatment of oral fungal infections in the oncology population.[19][Level of evidence: II];[20][Level of evidence: III]

#### Noncandidal fungal infections

Although most oral fungal infections involve Candida, there are occasional case reports of other oral fungal infections in immunosuppressed populations, including cancer patients. For example, a few cases of oral mucormycosis have been reported in patients with hematologic malignancies who receive a bone marrow transplant.[21] Such noncandidal oral fungal infections carry a high risk of fungemia and mortality in immunocompromised patients; systemic antifungal therapy must be promptly initiated.

### Viral Infections

#### Herpes virus

Herpes group viral infections, including those caused by oral lesions, can cause a variety of diseases that range from mild to serious in patients undergoing treatment for cancer. The severity and impact of these lesions and systemic sequelae are directly related to the patient's extent of immunocompromise. Comorbid oral conditions such as mucositis or graft-versus-host disease can dramatically increase the severity of oral lesions and significantly increase the difficulty of diagnosis.

A systematic review was conducted by the Mucositis Study Group of the Multinational Association of Supportive Care in Cancer/International Society of Oral Oncology.[22] Eighteen of 41 studies focused on outcome measures in preventing oral viral infection. This review reported findings to confirm the use of acyclovir and valacyclovir in preventing and treating oral herpetic infections.

Early diagnosis and prompt therapy remain hallmarks of management. As with other infections, the risk of systemic dissemination and morbidity/mortality increases with the degree and duration of immunocompromise. The infections can be fatal, depending on the degree of immunosuppression.

##### Herpes simplex virus (HSV)

Oral herpetic lesions can range from routine herpes labialis to severe stomatitis causing large, painful ulcerations throughout the mouth. Lesion severity increases with higher degrees of immunosuppression.

The introduction of valacyclovir appears to have reduced the incidence of breakthrough oral HSV infections. Topical therapy alone is generally not efficacious in patients who are immunocompromised.

In patients who are not receiving antiviral prophylaxis, oral lesions typically emerge concurrent with chemotherapy or chemoradiation therapy during the period of most significant immunosuppression (white blood cell nadir). Typically, in patients receiving a hematopoietic stem cell transplant, this represents the period a few days pretransplant through day 35 posttransplant. The risk of HSV reactivation remains higher than normal until immune reconstitution occurs. Similar patterns of risk are noted in patients receiving high-dose (immunosuppressive) chemotherapy.

Recurrent oral HSV infections occurring simultaneously with cancer therapy–induced oral mucositis can result in the development of extensive, confluent mucosal ulcerations clinically similar to primary herpetic stomatitis. Thus, HSV stomatitis can be confused with cancer therapy–induced ulcerative mucositis. Viral cultures from lesions in HSV-seropositive patients are essential for accurate diagnoses. Assays that produce more rapid results, including direct immunofluorescence, shell vial testing, and specific immunoassays for HSV antigen and/or biopsy, may also be useful.

##### Varicella-zoster virus (VZV)

VZV infection classically distributes via dermatomes, although the clinical manifestations can be altered in immunocompromised patients, and multiple dermatomes or more widespread distribution of lesions can be seen. In patients who are receiving high-dose chemotherapy, orofacial VZV lesions are typically observed several weeks after cessation of chemotherapy—unlike HSV, which often occurs within 2 to 3 weeks after chemotherapy is discontinued.

##### Cytomegalovirus

Oral lesions associated with cytomegalovirus have been documented in immunocompromised patients, including those who have undergone a bone marrow transplant.[23][Level of evidence: IV]

Appearance is not pathognomonic and is characterized by multiple mild to moderate ulcerations with irregular margins. The lesions initially present during early periods of marrow regeneration (e.g., 3 weeks after chemotherapy is discontinued) and are characterized by nonspecific pseudomembranous fibrin exudate–covered ulcerations with a granulomatous-appearing base. Surface swab cultures may yield false-negative results, perhaps because of viral propensity for infecting endothelial cells and fibroblasts, resulting in low levels of free virus.

##### Epstein-Barr virus (EBV)

EBV is linked to tumor development. In addition, oral hairy leukoplakia has been attributed to EBV infection in immunocompromised patients, as seen in HIV-infected patients and solid organ transplant patients. However, the lesion does not appear to be clinically significant in chemotherapy recipients.

#### Non–herpes group virus infections

Infections caused by non–herpes group viruses are more common in immunocompromised patients, with the risk of infection apparently increasing with the depth and duration of immunosuppression. Oral lesions caused by adenovirus and oral human papillomavirus (HPV) have been described.[23][Level of evidence: IV] Often, patients with increased cutaneous HPV lesions will develop oral lesions. These lesions can present as hyperkeratotic verrucoid lesions or as flat acuminata-like lesions.

Restoration of immune function often results in a digression and, possibly, the disappearance of the oral mucosal lesions. Laser surgery or cryotherapy are typically used to remove oral HPV lesions when medically or cosmetically required. Intralesional injections of interferon-alpha may prove effective for recurrent lesions. Infection with coxsackie viruses can occur but is generally uncommon. Although adenovirus infections are often implicated as a potential cause of oral lesions, their true incidence is not known.[23][Level of evidence: IV]

### References

Pedersen AML, Sørensen CE, Proctor GB, et al.: Salivary secretion in health and disease. J Oral Rehabil 45 (9): 730-746, 2018.29878444
Spijkervet FKL, Schuurhuis JM, Stokman MA, et al.: Should oral foci of infection be removed before the onset of radiotherapy or chemotherapy? Oral Dis 27 (1): 7-13, 2021.32166855
de Oliveira MCQ, Lebre Martins BNF, Santos-Silva AR, et al.: Dental treatment needs in hospitalized cancer patients: a retrospective cohort study. Support Care Cancer 28 (7): 3451-3457, 2020.31802252
Hong BY, Sobue T, Choquette L, et al.: Chemotherapy-induced oral mucositis is associated with detrimental bacterial dysbiosis. Microbiome 7 (1): 66, 2019.31018870
Ullmann AJ, Schmidt-Hieber M, Bertz H, et al.: Infectious diseases in allogeneic haematopoietic stem cell transplantation: prevention and prophylaxis strategy guidelines 2016. Ann Hematol 95 (9): 1435-55, 2016.27339055
Villa A, Akintoye SO: Dental Management of Patients Who Have Undergone Oral Cancer Therapy. Dent Clin North Am 62 (1): 131-142, 2018.29126490
Hong CHL, Hu S, Haverman T, et al.: A systematic review of dental disease management in cancer patients. Support Care Cancer 26 (1): 155-174, 2018.28735355
Kishimoto M, Akashi M, Tsuji K, et al.: Intensity and duration of neutropenia relates to the development of oral mucositis but not odontogenic infection during chemotherapy for hematological malignancy. PLoS One 12 (7): e0182021, 2017.28750016
Mauramo M, Grolimund P, Egli A, et al.: Dissociations of oral foci of infections with infectious complications and survival after haematopoietic stem cell transplantation. PLoS One 14 (12): e0225099, 2019.31851665
Castagnola E, Mikulska M, Viscoli C: Prophylaxis and Empirical Therapy of Infection in Cancer Patients. In: Bennett JE, Dolin R, Blaser MJ, eds.: Principles and Practice of Infectious Diseases. 8th ed.: Elsevier, Inc., 2015, Elsevier, Inc., 2015, pp 3395-413. Available online (https://www.ncbi.nlm.nih.gov/pmc/articles/PMC7173426/). Last accessed October 10, 2023.
Ohbayashi Y, Imataki O, Uemura M, et al.: Oral microorganisms and bloodstream infection in allogeneic hematopoietic stem cell transplantation. Clin Oral Investig 25 (7): 4359-4367, 2021.33392808
Zecha JAEM, Raber-Durlacher JE, Laheij AMGA, et al.: The impact of the oral cavity in febrile neutropenia and infectious complications in patients treated with myelosuppressive chemotherapy. Support Care Cancer 27 (10): 3667-3679, 2019.31222393
Decker AM, Taichman LS, D'Silva NJ, et al.: Periodontal Treatment in Cancer Patients: An Interdisciplinary Approach. Curr Oral Health Rep 5 (1): 7-12, 2018.29910997
Bogusławska-Kapała A, Hałaburda K, Rusyan E, et al.: Oral health of adult patients undergoing hematopoietic cell transplantation. Pre-transplant assessment and care. Ann Hematol 96 (7): 1135-1145, 2017.28194493
Bollero P, Passarelli PC, D'Addona A, et al.: Oral management of adult patients undergoing hematopoietic stem cell transplantation. Eur Rev Med Pharmacol Sci 22 (4): 876-887, 2018.29509233
Hellstein JW, Marek CL: Candidiasis: Red and White Manifestations in the Oral Cavity. Head Neck Pathol 13 (1): 25-32, 2019.30693459
Lewis MAO, Williams DW: Diagnosis and management of oral candidosis. Br Dent J 223 (9): 675-681, 2017.29123282
Nishii M, Soutome S, Kawakita A, et al.: Factors associated with severe oral mucositis and candidiasis in patients undergoing radiotherapy for oral and oropharyngeal carcinomas: a retrospective multicenter study of 326 patients. Support Care Cancer 28 (3): 1069-1075, 2020.31177394
Singh GK, Capoor MR, Nair D, et al.: Spectrum of fungal infection in head and neck cancer patients on chemoradiotherapy. J Egypt Natl Canc Inst 29 (1): 33-37, 2017.28258917
Kawashita Y, Funahara M, Yoshimatsu M, et al.: A retrospective study of factors associated with the development of oral candidiasis in patients receiving radiotherapy for head and neck cancer: Is topical steroid therapy a risk factor for oral candidiasis? Medicine (Baltimore) 97 (44): e13073, 2018.30383690
Cheong HS, Kim SY, Ki HK, et al.: Oral mucormycosis in patients with haematologic malignancies in a bone marrow transplant unit. Mycoses 60 (12): 836-841, 2017.28877386
Elad S, Zadik Y, Hewson I, et al.: A systematic review of viral infections associated with oral involvement in cancer patients: a spotlight on Herpesviridea. Support Care Cancer 18 (8): 993-1006, 2010.20544224
Schubert MM, Correa MEP, Peterson DE: Oral complications of hematopoietic cell transplantation. In: Forman SJ, Negrin RS, Antin JH, et al., eds.: Thomas’ Hematopoietic Cell Transplantation: Stem Cell Transplantation. 5th ed. John Wiley & Sons, Ltd, 2016, pp 1242-56.

## Hemorrhage

Hemorrhage is a concern for patients who are receiving high-dose chemotherapy or undergoing hematopoietic stem cell transplant. It may occur during treatment-induced thrombocytopenia and/or coagulopathy.[1] Spontaneous gingival oozing may occur when platelet counts drop below 20,000/µL, especially when there is preexisting gingivitis or periodontitis. Even normal function or routine oral hygiene (brushing and flossing) can induce gingival oozing with preexisting gingivitis and periodontitis, compounded by hematologic change and biochemical changes in coagulation. Management requires attention by a multidisciplinary team to local measures, platelet count and function, and coagulation.

Although rarely serious, oral bleeds can be of concern to the patient and family. Oral bleeding may be mild (e.g., petechiae located on the lips, soft palate, or floor of the mouth) or severe (e.g., persistent gingival hemorrhage or bleeding from herpes simplex virus ulcers in the face of severe thrombocytopenia).

Healthy gingival tissues do not bleed unless traumatized. Discontinuation of routine oral hygiene can increase the risk of gingival infection, which may promote bleeding and increase the risk of local and systemic infection due to accumulation of bacterial plaque. This may lead to periodontal infections and tissue breakdown.

The degree of health professional oversight of thrombocytopenic patients is an important consideration relative to risk of mechanical hygiene procedures. With comprehensive monitoring, patients can often safely use dental brushing and interdental cleaning throughout the thrombocytopenic episode.

Local measures to manage oral bleeds include the following:

- Pressure application. Pressure can be applied by gauze or custom-made oral appliances; these can also be used to deliver and maintain topical agents at the site of bleeding.
- Locally applied clot-forming agents. Topical thrombin and/or hemostatic collagen agents and tranexamic acid can be used to stabilize clots.
- Vasoconstrictors. Epinephrine can be used topically to reduce blood flow rates through bleeding vessels, although vessel rebound is a potential concern.
- Tissue protectants. Application of mucosal adherent products (including cyanoacrylate products) help seal bleeding sites and protect organized clots; platelet-rich plasma may be used.

Patients who tend to form friable and easily dislodged clots will benefit from topical application of aminocaproic acid. In some instances, intravenous administration can be considered to improve coagulation and the formation of stable clots.

Application of 3% hydrogen peroxide and 0.9% saline (1:2 to 1:3 by volume) can aid in wound cleansing and removal of superficial blood debris. Care must be taken not to disturb clots, which might promote bleeding.[1] Laser application for local coagulation may be considered.

### References

Schubert MM, Correa MEP, Peterson DE: Oral complications of hematopoietic cell transplantation. In: Forman SJ, Negrin RS, Antin JH, et al., eds.: Thomas’ Hematopoietic Cell Transplantation: Stem Cell Transplantation. 5th ed. John Wiley & Sons, Ltd, 2016, pp 1242-56.

## Relapse and Second Malignancy

Gingival infiltrates, oral infection, and/or bleeding disproportionate to local etiology can indicate a possible relapse, especially in patients treated for leukemias or lymphomas.

Relapse of non–head and neck solid tumors occurring as oral metastases is rarely observed. Second head and neck tumors are expected to occur in up to 15% of head and neck cancer patients in a stable incidence over the years, and human papillomavirus status may influence this outcome.[1] Locoregional recurrences usually occur in the first 2 years after treatment. The same follow-up protocol is indicated in cases of a second malignant event.[2]

### References

Adjei Boakye E, Buchanan P, Hinyard L, et al.: Risk and outcomes for second primary human papillomavirus-related and -unrelated head and neck malignancy. Laryngoscope 129 (8): 1828-1835, 2019.30582167
Brands MT, Smeekens EAJ, Takes RP, et al.: Time patterns of recurrence and second primary tumors in a large cohort of patients treated for oral cavity cancer. Cancer Med 8 (12): 5810-5819, 2019.31400079

## Taste Disorder

Dysgeusia, taste disorder, can be a prominent symptom in patients who are receiving chemotherapy or head/neck radiation.[1] Etiology is likely associated with several factors, including direct neurotoxicity to taste buds, xerostomia, infection, and psychologic conditioning. Also, cancer treatments may impair taste bud cell regeneration, leading to a diminished function.[2] In addition, taste dysfunction can be associated with damage caused by graft-versus-host disease to the taste perception units. For more information, see the GVHD section.

Patients receiving chemotherapy may experience unpleasant taste secondary to diffusion of drug into the oral cavity. In addition, patients often describe dysgeusia in the early weeks after cessation of cytotoxic therapy that has a negative impact on quality of life. Taste disturbances during chemotherapy are influenced by nausea and reduced appetite, so they can impact nutrition. This symptom is generally reversible, and taste sensation returns to normal in the ensuing months. For more information, see Nutrition in Cancer Care.

By comparison, a total fractionated radiation dose higher than 3,000 Gy reduces acuity of sweet, sour, bitter, and salt tastes. Damage to the microvilli and outer surface of taste cells has been proposed as the principal mechanism for loss of the sense of taste. Even patients with non-oral head and neck cancer frequently show disturbed taste when they are treated with mouth-sparing radiation therapy.[3]

### References

Hovan AJ, Williams PM, Stevenson-Moore P, et al.: A systematic review of dysgeusia induced by cancer therapies. Support Care Cancer 18 (8): 1081-7, 2010.20495984
Epstein JB, Smutzer G, Doty RL: Understanding the impact of taste changes in oncology care. Support Care Cancer 24 (4): 1917-31, 2016.26820877
Barbosa da Silva JL, Doty RL, Miyazaki JVMK, et al.: Gustatory disturbances occur in patients with head and neck cancer who undergo radiotherapy not directed to the oral cavity. Oral Oncol 95: 115-119, 2019.31345378

## Medication-Related Osteonecrosis of the Jaw

### Overview

Bisphosphonates are potent inhibitors of osteoclasts. They are used in cancer patients with skeletal metastases, including breast, prostate, or lung cancer, and in patients with multiple myeloma. Bisphosphonates are also used to treat hypercalcemia of malignancy and to prevent osteoporosis in patients with cancer.[1 ,2] For more information on bisphosphonates, see the Bisphosphonates and denosumab section in Cancer Pain.

Clinical trials reveal that antiangiogenic drugs can be associated with the development of medication-related osteonecrosis of the jaw (MRONJ) when used as a single drug or in combination with bone-modifying agents (BMAs). When antiangiogenics are used with bisphosphonates, the risk of MRONJ increases significantly.[3-6]

Osteonecrosis of the jaw is no longer a problem exclusively associated with the use of bisphosphonates; it is also associated with the use of other drugs such as the monoclonal antibody denosumab and antiangiogenics such as bevacizumab and sorafenib. For this reason, the term MRONJ, rather than the term bisphosphonate-related osteonecrosis of the jaw, should be used to refer to bone necrosis associated with pharmacological therapies.[7,8]

Table 13. Cancer Drugs and Biologics Associated With Medication-Related Osteonecrosis of the Jaw

Generic Drug (Trade Name) | Indication | Class of Drug | Mode of Action | Reported to Cause MRONJ?
Zoledronic acid | Bone metastasis; bone loss from cancer therapy) | Bisphosphonate | Inhibition of osteoclasts | Yes
Pamidronate | Bone loss from cancer therapy | Bisphosphonate | Inhibition of osteoclasts | Yes
Alendronate | Bone loss from cancer therapy | Bisphosphonate | Inhibition of osteoclasts | Yes
Denosumab | Bone metastasis; osteoporosis; bone loss from cancer therapy | Humanized monoclonal antibody | Suppression of bone remodeling by inhibition of RANKL | Yes
Bevacizumab | Metastatic colorectal cancer; nonsquamous non-small cell lung cancer; metastatic breast cancer; glioblastoma; metastatic renal cell carcinoma | Antiangiogenic | Inhibition of angiogenesis by blocking the action of VEGF | Yes
Sunitinib | Advanced renal cell carcinoma; GIST | Antiangiogenic | Inhibition of angiogenesis by blocking VEGF tyrosine kinase | Yes
Sorafenib | Renal cell carcinoma; hepatocellular carcinoma | Antiangiogenic | Inhibition of angiogenesis by blocking VEGF tyrosine kinase | Yes, when combined with bone-modifying agent

GIST = gastrointestinal stromal tumor; MRONJ = medication-related osteonecrosis of the jaw; RANKL = receptor activator of nuclear factor kappa beta ligand; VEGF = vascular endothelial growth factor.

### Incidence

The occurrence of MRONJ ranges between 1% and 8% in patients treated with a BMA for bone metastases or multiple myeloma, and between 0 and 1.8% in cancer patients treated with adjuvant BMA for osteoporosis prevention.[8] The prevalence of MRONJ varies according to study design, diagnostic criteria, type of BMA, and dosage. MRONJ lesions are also more prevalent in areas with thin mucosa overlying bone prominences, such as tori, exostoses, and the mylohyoid ridge.[9]

### Diagnosis

A diagnosis of MRONJ is based on the following factors:[6,9]

- Exposed bone or bone that can be probed through an intraoral or extra oral fistula(e) in the maxillofacial region and that does not heal within 8 weeks.
- Patient has received a BMA or angiogenic inhibitor agent.
- Patient has no history of head and neck radiation.

It is also possible that symptoms of dental disease, periodontal disease, or both may be present, without visible exposed bone.[6]

Table 14. Bone-Modifying Agents and Risk of Medication-Related Osteonecrosis of the Jaw^a^

Drug | Indication | Route | Dose (mg) | Schedule | Frequency of MRONJ, %^b^
Pamidronate | Bone metastasis of solid tumors; multiple myeloma | IV | 90 | Every 3-4 wk | 3.2–5.0[10,11]
Zoledronic acid | Bone metastasis of solid tumors | IV | 4 | Every 3–4 wk or 12 wk | 1.0–8.0[12,13]
| Adjuvant treatment | IV | 4 | Every 3–6 mo | 0–1.8[14-16]
Denosumab | Bone metastasis of solid tumors | SC | 120 | Every 4 wk | 0.7–6.9^c^[7,17,18]
| Adjuvant treatment | SC | 60 | Every 6 mo | 0[19]

IV = intravenous; MRONJ = medication-related osteonecrosis of the jaw; SC = subcutaneous.

^a^Adapted from Yarom et al.[8]

^b^Risk of MRONJ varies by duration of treatment.

^c^The estimate of 6.9% is from the open-label extension phase of two phase III studies.[7] It is not adjusted for patient-years of exposure or patient follow-up and does not include cases that occurred during the blinded treatment phase. The patient-year adjusted incidence of confirmed MRONJ was 1.1% during the first year of denosumab treatment, 3.7% in the second year, and 4.6% per year thereafter.

### Staging of MRONJ

A well-established staging system should be used to quantify the severity and extent of MRONJ and to guide management decisions. The same system should be used throughout the patient’s MRONJ course of case. Diagnostic imaging may be used as an adjunct to these staging systems. Optimally, staging should be performed by a clinician who is experienced with the management of MRONJ.[8]

The following two staging systems represent the most frequently used scales, as reported in the literature:

- American Association of Oral and Maxillofacial Surgeons (AAOMS) system.[6]
- Osteonecrosis of the jaw severity scale (Common Terminology Criteria for Adverse Events).[20]

In 2009, AAOMS added a stage 0, which refers to any symptoms of bone pain, fistulous track formation, abscess formation, and altered sensory function. It also includes abnormal radiographic findings that, in the absence of a fistula to bone or frank bone exposure, extend beyond the confines of the alveolar bone as a definitive precursor to MRONJ in patients receiving BMA therapy. The risk of a patient's stage 0 disease progressing to a higher disease stage remains unclear, although case studies suggest that such progression may occur in up to 50% of patients.[21]

The International Task Force of Osteonecrosis of the Jaw expressed concern that the use of stage 0 terminology may lead to overdiagnosis of MRONJ because initial presenting symptoms may ultimately lead to an alternative diagnosis.[22,23] The Multinational Association of Supportive Care in Cancer/International Society of Oral Oncology/American Society of Clinical Oncology Expert Panel shares these concerns and suggests considering stage 0 as an indicator of increased risk of MRONJ. Identifying the increased risk status could prompt a referral to a dental specialist for close follow-up with assessment for early-stage MRONJ, should it develop, to optimize oral health.

Table 15. Staging and Treatment Strategies for Medication-Related Osteonecrosis of the Jaw^a^

MRONJ Staging | Clinical and Radiographic Presentations | Treatment Strategies
At-risk category | No apparent necrotic bone in patients who have been treated with either oral or IV bisphosphonates | No treatment indicated; patient education and reduction of modifiable risk factors
Increased risk | No clinical evidence of necrotic bone, but nonspecific clinical findings and symptoms | Systemic management, including use of pain medication and close scrutiny and follow-up; refer to dental specialist and follow up every 8 wk with communication of lesion status to oncologist; patient education and reduction of modifiable risk factors
Stage 1 | Exposed and necrotic bone in patients who are asymptomatic and have no evidence of infection | Antibacterial mouth rinse; clinical follow-up every 3 mo; patient education; review of indications for continued bisphosphonate therapy
Stage 2 | Exposed and necrotic bone associated with infection, as evidenced by pain and erythema in the region of the exposed bone, with or without purulent drainage | Symptomatic treatment with oral antibiotics; oral antibacterial mouth rinse; pain control; superficial debridement to relieve irritation of soft tissue
Stage 3 | Exposed and necrotic bone in patients with pain, infection, and one or more of the following: exposed and necrotic bone extending beyond the region of alveolar bone (i.e., inferior border and ramus in the mandible, maxillary sinus, and zygoma in the maxilla), resulting in pathological fracture, extraoral fistula, oral antral/oral nasal communication, or osteolysis extending to the inferior border of the mandible of sinus floor | Antibacterial mouth rinse; antibiotic therapy and pain control; surgical debridement/resection for longer-term palliation of infection and pain

IV = intravenous; MRONJ = medication-related osteonecrosis of the jaw.

^a^Adapted from Yarom et al.[8] and Ruggiero et al.[6]

#### Management of MRONJ measures

Aggressive surgical interventions (e.g., mucosal flap elevation, block resection of necrotic bone, soft tissue closer) may be used if MRONJ results in persistent symptoms or impacts function despite initial conservative treatment. Aggressive surgical intervention is not recommended for asymptomatic bone exposure. In advance of the aggressive surgical intervention, the multidisciplinary care team and the patient should thoroughly discuss the risks and benefits of the proposed intervention.[24]

Table 16. Proposed Terms to Characterize Osteonecrosis of the Jaw After Treatment^a^

Term | Mucosal Coverage | Symptom/Pain | Sign of Infection/Inflammation | Radiographic Presentation
Resolved | Complete healing | No pain | None | Trabecular pattern, formation lamina dura resorbed
Improving | Significant improvement (>50% of mucosal coverage) | Significant improvement (>50% reduction of pain, VAS) | Significant improvement (no signs of infection/inflammation) | Improved trabecular pattern, signs of sequestra
Stable | Mild improvement (<50% of mucosal coverage) | Mild improvement (<50% reduction of pain, VAS) | Mild improvement (mild signs of infection/inflammation) | No changes
Progressive | No improvement or worsening | No improvement or worsening | No improvement | Lytic changes, decreasing trabeculation, increased size of radiographic lesion

VAS = visual analog scale.

^a^Adapted from Yarom et al.[8]

### Reducing Risk of Development of MRONJ

For cancer patients scheduled to receive a BMA in a nonurgent setting, oral care assessment (including a comprehensive dental, periodontal, and oral radiographic exam, when feasible to do so) is undertaken before therapy is initiated. After the assessment, the dentist and oncologist will develop and implement a dental care plan and coordinate with each other to ensure that medically necessary dental procedures are undertaken before a BMA is initiated. The dentist will follow up on a routine schedule once therapy with a BMA has started.

Table 17. Complete, Partial, and Minimal Dental Evaluation Protocols, Based on Dental and/or Periodontal Pathology^a^

Dental Pathology | Complete^b^ | Partial^c^ | Minimal, Incomplete, or No Clearance^d^
Caries | Restore all teeth | Restore mild/moderate caries if time permits | Intervene only if symptomatic
Severe caries/pulp involvement/dental abscess | Perform root canal treatment or extraction | | Intervene only if symptomatic
Apical periodontitis | Retreat | Treat symptomatic lesions and lesions >5 mm | Intervene only if symptomatic
Apical periodontitis | Perform apicoectomy | Observe asymptomatic lesions and lesions <5 mm
Apical periodontitis | Extract teeth | Observe asymptomatic lesions and lesions <5 mm
Advanced periodontal disease | Extract teeth with: | Extract teeth with:
Advanced periodontal disease | – Probing depth >6 mm | – Probing depth >8 mm
| – Furcation I, II, III; Mobility III | – Mobility III
| – Severe inflammation | – Severe inflammation
Partially erupted third molars | Extract partially erupted third molars | Observe asymptomatic teeth
Partially erupted third molars | Extract partially erupted third molars | Extract partially erupted third molars with purulence of pericoronitis

^a^Adapted from Hong et al.[25]

^b^Adapted from Haytac et al.[26] and Melkos et al.[27]

^c^Adapted from Schuuhuis et al.[28] and Tsuji et al.[29]

^d^Adapted from Haytac et al.,[26] Melkos et al.,[27] Schuuhuis et al.,[28], Tsuji et al.[29], and Gurgan et al.[30]

Members of the multidisciplinary team should address modifiable risk factors for MRONJ with the patient as early as possible. These risk factors include:

- Dental extractions.[31-33]
- Other oral surgeries.[32,34]
- Ill-fitting dentures.[12,33,35]
- Intravenous bisphosphonates (pamidronate, zoledronic acid, denosumab).[31,33]
- Time on medication.[31,33,36]
- Poor dental and periodontal health.[22,37]
- Tobacco use.[38]

Elective dentoalveolar surgical procedures (e.g., medically unnecessary extractions, alveoplasties, and implants) should not be performed during active therapy with a BMA at an oncologic dose. Exceptions may be considered when a dental specialist with expertise in prevention and treatment of MRONJ has reviewed the benefits and risks of the proposed invasive procedure with the patient and the oncology team.[8]

If dentoalveolar surgery is performed, the dental specialist must evaluate patients frequently until full mucosal coverage of the surgical site has occurred. Communication with the oncologist regarding the status of healing is encouraged, particularly when considering future use of BMA.[8]

For patients with cancer who are receiving a BMA at an oncologic dose, there is insufficient evidence to support or refute discontinuation of the BMA before dentoalveolar surgery. Administration of the BMA may be deferred at the discretion of the treating physician, in consultation with the patient and oral health-provider.[8,39]

Table 18. Daily Oral Care Plan for Patients (Multinational Association of Supportive Care in Cancer/International Society of Oral Oncology)^a^

Intervention | Basic Oral Care Plan
Flossing | Floss at least once/d; waxed floss may be easier to use and minimize trauma to the gingivae.
Flossing | If flossing causes bleeding of the gums that does not stop after 2 minutes, consult oncology team.
Brushing | Use a small, ultra-soft-headed, round-end, bristle toothbrush (an ultrasonic toothbrush may be acceptable).
Brushing | Rinse toothbrush in hot water to soften brush before using.
| Use prescription-strength fluoride toothpaste; spit out the foam but do not rinse the mouth.
| Use remineralizing pastes and chewing gum containing calcium and phosphate.
| Brush within 30 min after eating and before bed; include the gingival portion of the tooth and periodontal sulcus.
| Brush tongue gently from back to front.
| Rinse brush after use in hot water and allow to air dry.
| Change toothbrush when bristles are not standing up straight.
For patients with dentures | Remove dentures before brushing.
For patients with dentures | Brush and rinse dentures after meals and at bedtime.
For patients with dentures | Remove from mouth for long periods (at least 8 hours per 24 hours) and soak in rinsing solution.
Rinsing | Rinse the oral cavity vigorously to help maintain moisture in the mouth, remove remaining debris, and reduce accumulation of plaque and infection.
Rinsing | Rinse, swish, and spit with a bland rinse (1 tsp salt and 1 tsp baking soda in 4 c water) several times a day.
Rinsing | Avoid club soda because of the presence of carbonic acids.
Rinsing | Commercial mouthwashes with alcohol base or astringent properties are not recommended for patients with oral complications.
Rinsing | Debride only if absolutely necessary and if loose tissue causes gagging or choking.
Moisturizing the oral cavity | Moisturize the mouth with water, artificial saliva products, or other water-soluble lubricants for use inside the mouth.
Moisturizing the oral cavity | Avoid glycerin or lemon-glycerin swabs, as they dry the mouth and do not moisturize.
| Apply lubricant after each cleaning, at bedtime, and as needed. Apply water-based lubricant more frequently.
| Rinse often with basic mouth rinse.
Lip care | To keep lips lubricated and moisturized, use only animal- or plant-based oils such as beeswax, cocoa butter, and lanolin. Avoid petroleum-based products, as these cause drying and cracking.
Visit the dentist at least every 6 mo.
Notify dentist or oncologist of any oral signs or symptoms.

^a^Adapted from Yarom et al.[8]

### References

Shapiro CL, Van Poznak C, Lacchetti C, et al.: Management of Osteoporosis in Survivors of Adult Cancers With Nonmetastatic Disease: ASCO Clinical Practice Guideline. J Clin Oncol 37 (31): 2916-2946, 2019.31532726
Migliorati CA, Casiglia J, Epstein J, et al.: Managing the care of patients with bisphosphonate-associated osteonecrosis: an American Academy of Oral Medicine position paper. J Am Dent Assoc 136 (12): 1658-68, 2005.16383047
Smidt-Hansen T, Folkmar TB, Fode K, et al.: Combination of zoledronic Acid and targeted therapy is active but may induce osteonecrosis of the jaw in patients with metastatic renal cell carcinoma. J Oral Maxillofac Surg 71 (9): 1532-40, 2013.23642545
Nicolatou-Galitis O, Kouri M, Papadopoulou E, et al.: Osteonecrosis of the jaw related to non-antiresorptive medications: a systematic review. Support Care Cancer 27 (2): 383-394, 2019.30353228
Otto S, Pautke C, Van den Wyngaert T, et al.: Medication-related osteonecrosis of the jaw: Prevention, diagnosis and management in patients with cancer and bone metastases. Cancer Treat Rev 69: 177-187, 2018.30055439
Ruggiero SL, Dodson TB, Fantasia J, et al.: American Association of Oral and Maxillofacial Surgeons position paper on medication-related osteonecrosis of the jaw--2014 update. J Oral Maxillofac Surg 72 (10): 1938-56, 2014.25234529
Stopeck AT, Fizazi K, Body JJ, et al.: Safety of long-term denosumab therapy: results from the open label extension phase of two phase 3 studies in patients with metastatic breast and prostate cancer. Support Care Cancer 24 (1): 447-455, 2016.26335402
Yarom N, Shapiro CL, Peterson DE, et al.: Medication-Related Osteonecrosis of the Jaw: MASCC/ISOO/ASCO Clinical Practice Guideline. J Clin Oncol 37 (25): 2270-2290, 2019.31329513
Khan A, Morrison A, Cheung A, et al.: Osteonecrosis of the jaw (ONJ): diagnosis and management in 2015. Osteoporos Int 27 (3): 853-859, 2016.26493811
Gimsing P, Carlson K, Turesson I, et al.: Effect of pamidronate 30 mg versus 90 mg on physical function in patients with newly diagnosed multiple myeloma (Nordic Myeloma Study Group): a double-blind, randomised controlled trial. Lancet Oncol 11 (10): 973-82, 2010.20863761
Jadu F, Lee L, Pharoah M, et al.: A retrospective study assessing the incidence, risk factors and comorbidities of pamidronate-related necrosis of the jaws in multiple myeloma patients. Ann Oncol 18 (12): 2015-9, 2007.17804475
Himelstein AL, Foster JC, Khatcheressian JL, et al.: Effect of Longer-Interval vs Standard Dosing of Zoledronic Acid on Skeletal Events in Patients With Bone Metastases: A Randomized Clinical Trial. JAMA 317 (1): 48-58, 2017.28030702
Vahtsevanos K, Kyrgidis A, Verrou E, et al.: Longitudinal cohort study of risk factors in cancer patients of bisphosphonate-related osteonecrosis of the jaw. J Clin Oncol 27 (32): 5356-62, 2009.19805682
Coleman RE, Collinson M, Gregory W, et al.: Benefits and risks of adjuvant treatment with zoledronic acid in stage II/III breast cancer. 10 years follow-up of the AZURE randomized clinical trial (BIG 01/04). J Bone Oncol 13: 123-135, 2018.30591866
Hershman DL, McMahon DJ, Crew KD, et al.: Zoledronic acid prevents bone loss in premenopausal women undergoing adjuvant chemotherapy for early-stage breast cancer. J Clin Oncol 26 (29): 4739-45, 2008.18711172
Shapiro CL, Halabi S, Hars V, et al.: Zoledronic acid preserves bone mineral density in premenopausal women who develop ovarian failure due to adjuvant chemotherapy: final results from CALGB trial 79809. Eur J Cancer 47 (5): 683-9, 2011.21324674
Qi WX, Tang LN, He AN, et al.: Risk of osteonecrosis of the jaw in cancer patients receiving denosumab: a meta-analysis of seven randomized controlled trials. Int J Clin Oncol 19 (2): 403-10, 2014.23605142
Scagliotti GV, Hirsh V, Siena S, et al.: Overall survival improvement in patients with lung cancer and bone metastases treated with denosumab versus zoledronic acid: subgroup analysis from a randomized phase 3 study. J Thorac Oncol 7 (12): 1823-1829, 2012.23154554
Gnant M, Pfeiler G, Dubsky PC, et al.: Adjuvant denosumab in breast cancer (ABCSG-18): a multicentre, randomised, double-blind, placebo-controlled trial. Lancet 386 (9992): 433-43, 2015.26040499
National Cancer Institute: Common Terminology Criteria for Adverse Events (CTCAE), Version 5.0. Bethesda, Md: U.S. Department of Health and Human Services, National Institutes of Health, 2017. Available online (https://ctep.cancer.gov/protocolDevelopment/electronic_applications/docs/CTCAE_v5_Quick_Reference_8.5x11.pdf). Last accessed Dec. 18, 2024.
Schiodt M, Reibel J, Oturai P, et al.: Comparison of nonexposed and exposed bisphosphonate-induced osteonecrosis of the jaws: a retrospective analysis from the Copenhagen cohort and a proposal for an updated classification system. Oral Surg Oral Med Oral Pathol Oral Radiol 117 (2): 204-13, 2014.24332520
Khan AA, Morrison A, Hanley DA, et al.: Diagnosis and management of osteonecrosis of the jaw: a systematic review and international consensus. J Bone Miner Res 30 (1): 3-23, 2015.25414052
Khan AA, Morrison A, Kendler DL, et al.: Case-Based Review of Osteonecrosis of the Jaw (ONJ) and Application of the International Recommendations for Management From the International Task Force on ONJ. J Clin Densitom 20 (1): 8-24, 2017 Jan - Mar.27956123
El-Rabbany M, Sgro A, Lam DK, et al.: Effectiveness of treatments for medication-related osteonecrosis of the jaw: A systematic review and meta-analysis. J Am Dent Assoc 148 (8): 584-594.e2, 2017.28527518
Hong CHL, Hu S, Haverman T, et al.: A systematic review of dental disease management in cancer patients. Support Care Cancer 26 (1): 155-174, 2018.28735355
Haytac MC, Dogan MC, Antmen B: The results of a preventive dental program for pediatric patients with hematologic malignancies. Oral Health Prev Dent 2 (1): 59-65, 2004.15641766
Melkos AB, Massenkeil G, Arnold R, et al.: Dental treatment prior to stem cell transplantation and its influence on the posttransplantation outcome. Clin Oral Investig 7 (2): 113-5, 2003.12768464
Schuurhuis JM, Span LF, Stokman MA, et al.: Effect of leaving chronic oral foci untreated on infectious complications during intensive chemotherapy. Br J Cancer 114 (9): 972-8, 2016.27002936
Tsuji K, Shibuya Y, Akashi M, et al.: Prospective study of dental intervention for hematopoietic malignancy. J Dent Res 94 (2): 289-96, 2015.25503612
Gürgan CA, Özcan M, Karakuş Ö, et al.: Periodontal status and post-transplantation complications following intensive periodontal treatment in patients underwent allogenic hematopoietic stem cell transplantation conditioned with myeloablative regimen. Int J Dent Hyg 11 (2): 84-90, 2013.22487659
Barasch A, Cunha-Cruz J, Curro F, et al.: Dental risk factors for osteonecrosis of the jaws: a CONDOR case-control study. Clin Oral Investig 17 (8): 1839-45, 2013.23212125
Kato GF, Lopes RN, Jaguar GC, et al.: Evaluation of socket healing in patients undergoing bisphosphonate therapy: experience of a single Institution. Med Oral Patol Oral Cir Bucal 18 (4): e650-6, 2013.23524435
Schiodt M, Vadhan-Raj S, Chambers MS, et al.: A multicenter case registry study on medication-related osteonecrosis of the jaw in patients with advanced cancer. Support Care Cancer 26 (6): 1905-1915, 2018.29275525
Vidal-Real C, Pérez-Sayáns M, Suárez-Peñaranda JM, et al.: Osteonecrosis of the jaws in 194 patients who have undergone intravenous bisphosphonate therapy in Spain. Med Oral Patol Oral Cir Bucal 20 (3): e267-72, 2015.25662540
Tsao C, Darby I, Ebeling PR, et al.: Oral health risk factors for bisphosphonate-associated jaw osteonecrosis. J Oral Maxillofac Surg 71 (8): 1360-6, 2013.23582590
Smith MR, Saad F, Coleman R, et al.: Denosumab and bone-metastasis-free survival in men with castration-resistant prostate cancer: results of a phase 3, randomised, placebo-controlled trial. Lancet 379 (9810): 39-46, 2012.22093187
Gabbert TI, Hoffmeister B, Felsenberg D: Risk factors influencing the duration of treatment with bisphosphonates until occurrence of an osteonecrosis of the jaw in 963 cancer patients. J Cancer Res Clin Oncol 141 (4): 749-58, 2015.25319961
Rabelo GD, Assunção JN, Chavassieux P, et al.: Bisphosphonate-Related Osteonecrosis of the Jaws and Its Array of Manifestations. J Maxillofac Oral Surg 14 (3): 699-705, 2015.26225065
Fusco V, Galassi C, Berruti A, et al.: Decreasing frequency of osteonecrosis of the jaw in cancer and myeloma patients treated with bisphosphonates: the experience of the oncology network of piedmont and aosta valley (north-Western Italy). ISRN Oncol 2013: 672027, 2013.23533811

## Special Considerations in Pediatric Populations

There has been a marked increase in the survival rates of childhood cancers because of advances in cancer therapy. However, this progress has resulted in an increase in the number of the late effects from antineoplastic therapy observed in children.[1] Approximately 60% to 80% of childhood cancer survivors develop at least one chronic condition caused by previous cancer treatment.[1] Altered dental growth and craniofacial development is a frequent complication in childhood cancer survivors who received high-dose chemotherapy and/or head and neck radiation.[2,3] For more information, see Late Effects of Treatment for Childhood Cancer.

The severity and location of dental and craniofacial abnormalities are typically associated with the type of cancer modality used and the age at which cancer therapy began.

### Dental Abnormalities

The reported incidence and types of dental abnormalities, such as hypodontia, may also alter craniofacial development and lead to malocclusion.

The following cancer modalities have been associated with higher incidence and more severe dental defects:

- High-dose chemotherapy, especially that involving alkylating agents (e.g., cyclophosphamide) and anthracyclines.[4,5][Level of evidence: II];[6][Level of evidence: II]
- Multimodality cancer regimens.[7][Level of evidence: II];[8][Level of evidence: III][9]
- Hematopoietic stem cell transplant conditioning regimens.[10]
- Head and neck radiation.[11][Level of evidence: II] For doses of 20 Gy or more, the odds ratio (OR) of developing at least one dental abnormality has been reported to be 5.6 (confidence interval [CI], 3.7–8.5) versus 1.3 (CI, 1.2–1.5) for radiation doses of 0 to 19 Gy.[4] Even though modern conformal intensity-modulated radiation therapy (IMRT) has been suggested to minimize these effects, reports have shown that IMRT still results in both dental and craniofacial developmental abnormalities.[12][Level of evidence: II];[13][Level of evidence: III]

The association between risk of dental abnormalities and age at time of cancer therapy ranges between age 3 years or younger to age 8 years.[10][Level of evidence: III][14][Level of evidence: II] However, there appear to be more reports documenting that children younger than 5 years at the time of chemotherapy are at increased risk of developing dental abnormalities. For head and neck radiation with doses 20 Gy or higher, the OR of having at least one dental abnormality was 5.6 for those aged 0 to 5 years and 9.6 for those aged 6 to 10 years.[4]

The impact of cancer therapy on dental age is unclear, with one study [15] reporting an advanced dental age and other studies reporting either no difference [16,17] or a delay in dental age.[18][Level of evidence: III];[19][Level of evidence: II]

### References

Crowder SL, Douglas KG, Yanina Pepino M, et al.: Nutrition impact symptoms and associated outcomes in post-chemoradiotherapy head and neck cancer survivors: a systematic review. J Cancer Surviv 12 (4): 479-494, 2018.29556926
Effinger KE, Migliorati CA, Hudson MM, et al.: Oral and dental late effects in survivors of childhood cancer: a Children's Oncology Group report. Support Care Cancer 22 (7): 2009-19, 2014.24781353
Gawade PL, Hudson MM, Kaste SC, et al.: A systematic review of dental late effects in survivors of childhood cancer. Pediatr Blood Cancer 61 (3): 407-16, 2014.24424790
Kaste SC, Goodman P, Leisenring W, et al.: Impact of radiation and chemotherapy on risk of dental abnormalities: a report from the Childhood Cancer Survivor Study. Cancer 115 (24): 5817-27, 2009.19834960
Hsieh SG, Hibbert S, Shaw P, et al.: Association of cyclophosphamide use with dental developmental defects and salivary gland dysfunction in recipients of childhood antineoplastic therapy. Cancer 117 (10): 2219-27, 2011.21523736
Nishimura S, Inada H, Sawa Y, et al.: Risk factors to cause tooth formation anomalies in chemotherapy of paediatric cancers. Eur J Cancer Care (Engl) 22 (3): 353-60, 2013.23336315
Maciel JC, de Castro CG, Brunetto AL, et al.: Oral health and dental anomalies in patients treated for leukemia in childhood and adolescence. Pediatr Blood Cancer 53 (3): 361-5, 2009.19484760
Kaste SC, Hopkins KP, Jones D, et al.: Dental abnormalities in children treated for acute lymphoblastic leukemia. Leukemia 11 (6): 792-6, 1997.9177429 97320578
Cubukcu CE, Sevinir B, Ercan I: Disturbed dental development of permanent teeth in children with solid tumors and lymphomas. Pediatr Blood Cancer 58 (1): 80-4, 2012.21254371
Hölttä P, Hovi L, Saarinen-Pihkala UM, et al.: Disturbed root development of permanent teeth after pediatric stem cell transplantation. Dental root development after SCT. Cancer 103 (7): 1484-93, 2005.15739206
Jaffe N, Toth BB, Hoar RE, et al.: Dental and maxillofacial abnormalities in long-term survivors of childhood cancer: effects of treatment with chemotherapy and radiation to the head and neck. Pediatrics 73 (6): 816-23, 1984.6728583
Owosho AA, Brady P, Wolden SL, et al.: Long-term effect of chemotherapy-intensity-modulated radiation therapy (chemo-IMRT) on dentofacial development in head and neck rhabdomyosarcoma patients. Pediatr Hematol Oncol 33 (6): 383-392, 2016.27689858
Paulino AC, Simon JH, Zhen W, et al.: Long-term effects in children treated with radiotherapy for head and neck rhabdomyosarcoma. Int J Radiat Oncol Biol Phys 48 (5): 1489-95, 2000.11121653 20573313
Hutton A, Bradwell M, English M, et al.: The oral health needs of children after treatment for a solid tumour or lymphoma. Int J Paediatr Dent 20 (1): 15-23, 2010.20059589
Vasconcelos NP, Caran EM, Lee ML, et al.: Dental maturity assessment in children with acute lymphoblastic leukemia after cancer therapy. Forensic Sci Int 184 (1-3): 10-4, 2009.19147312
Flores AP, Monti CF, Brunotto M: Dental and chronological age in children under oncological treatment. J Forensic Sci 60 (2): 453-6, 2015.25572724
Martin MB, Li CS, Rowland CC, et al.: Correlation of bone age, dental age, and chronological age in survivors of childhood acute lymphoblastic leukaemia. Int J Paediatr Dent 18 (3): 217-23, 2008.18298546
Bagattoni S, D'Alessandro G, Prete A, et al.: Oral health and dental late adverse effects in children in remission from malignant disease. A pilot case-control study in Italian children. Eur J Paediatr Dent 15 (1): 45-50, 2014.24745592
Purdell-Lewis DJ, Stalman MS, Leeuw JA, et al.: Long term results of chemotherapy on the developing dentition: caries risk and developmental aspects. Community Dent Oral Epidemiol 16 (2): 68-71, 1988.3162858

## Special Considerations in Geriatric Populations

An aging population is living with more chronic diseases, comorbidities, multidrug use, and cancers. The special care needs of the geriatric population should be assessed and considered in the development of cancer treatment protocols.

Oncologists need to promote oral health in frail older adults when they are about to undergo a cancer therapy that could have permanent or temporary impacts on oral/dental health. Pretherapy oral/dental evaluation is mandatory, and the follow-up of an older adult with frailty involves close monitoring (face to face or telehealth) and education of caregivers regarding oral and dental hygiene.

Quality-of-life (QOL) considerations should be a fundamental component in cancer management, whatever a patient’s age. In the field of oncology, it is apparent that the geriatric cancer population has special oral/dental needs. Special precautions are advised for this patient group. Dental professionals need to be part of the geriatric oncology team for better support of QOL.

## Latest Updates to This Summary (02/16/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

This summary was renamed from Oral Complications of Chemotherapy and Head/Neck Radiation.

This summary was comprehensively reviewed and extensively revised.

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the pathophysiology and treatment of oral complications of cancer therapies. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Oral Complications of Cancer Therapies are:

- Megan Reimann, PharmD, BCOP (Total CME)
- Andrea Ruskin, MD (VA Connecticut Healthcare System)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Oral Complications of Cancer Therapies. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat/oral-complications-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389320]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).